# Soft Tissue Sarcoma Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adults with soft tissue sarcoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Soft Tissue Sarcoma

### Incidence and Mortality

Estimated new cases and deaths from soft tissue sarcoma in the United States in 2025:[1]

- New cases: 13,520.
- Deaths: 5,410.

The reported international incidence of soft tissue sarcoma ranges from 1.8 to 5 cases per 100,000 individuals per year.[2] The rate of new cases of soft tissue cancer in the United States was 3.4 per 100,000 people per year based on age-adjusted cases from 2017 to 2021. The death rate was 1.3 per 100,000 people per year based on age-adjusted deaths from 2018 to 2022.[3]

### Risk Factors

Most soft tissue sarcomas are sporadic. Risk factors include:[4-6]

- Previous radiation therapy.
- Chronic lymphedema (risk factor for lymphangiosarcoma).
- Exposure to the chemicals thorium dioxide (Thorotrast), vinyl chloride, or arsenic. These are established carcinogens for hepatic angiosarcomas.
- HIV and human herpesvirus 8 infection. These viruses have been implicated in the pathogenesis of Kaposi sarcoma. For more information, see Kaposi Sarcoma Treatment.

Soft tissue sarcomas occur more frequently in patients with the following inherited syndromes:[4-6]

- Li-Fraumeni syndrome (TP53 pathogenic variant).
- von Recklinghausen disease (neurofibromatosis type 1; NF1 pathogenic variant).
- Gardner syndrome (APC pathogenic variant).
- Nevoid basal cell carcinoma syndrome (Gorlin syndrome; PTCH1 pathogenic variant).
- Tuberous sclerosis (Bourneville disease; TSC1 or TSC2 pathogenic variant).
- Werner syndrome (adult progeria; WRN pathogenic variant).

### Clinical Features

Soft tissue sarcomas are a heterogenous family of malignant tumors that may arise in nearly any organ system. The anatomical distribution in adults is as follows:[5]

- Extremities (45%).
- Intra-abdominal organs (38%).
- Trunk (10%).
- Head and neck (5%).

### Diagnostic Evaluation

Adequate tissue should be obtained via either image-guided core-needle biopsy or planned incisional biopsy (for select cases). The samples should be reviewed by a pathologist who is experienced in diagnosing sarcomas. Careful planning of the initial biopsy, with consultation among the surgeon, radiation oncologist, and interventional radiologist, is important to avoid compromising subsequent curative resection. In general, incisional biopsies are reserved for patients whose prior core-needle biopsies were nondiagnostic or when a core-needle biopsy cannot be safely performed because of anatomical constraints.

Before any intervention is initiated, imaging is performed to evaluate the sarcoma and determine if there are metastases. The following modalities may be used as clinically indicated:

- Plain radiography.
- Computed tomography (CT).
- Magnetic resonance imaging (MRI).
- Positron emission tomography (PET) scan and bone scan. May be used along with CT. PET imaging is particularly useful for sarcoma subtypes with a propensity for lymph node metastases (e.g., synovial sarcoma, clear cell sarcoma, angiosarcoma, rhabdomyosarcoma, and epithelioid sarcoma).

### Prognostic Factors

Poor prognostic factors in adults with soft tissue sarcomas include:[4-15]

- Age older than 60 years.
- Tumor size (e.g., larger than 5 cm in greatest dimension, variable impact depending on sarcoma subtype).
- High histological grade of the tumor (incorporating histology-specific differentiation, mitotic rate, and extent of tumor necrosis).
- Advanced pathological stage of the tumor at the time of diagnosis.
- Positive tumor margins after surgery.[10]

Small low-grade tumors, particularly in the trunk or extremities, are frequently curable by surgery alone. Higher-grade sarcomas are associated with higher local-treatment failure rates and increased metastatic potential.[16]

Prognostic nomograms (incorporating specific variables) have been developed for soft tissue sarcomas of the retroperitoneum and the extremities.[11-14]

### Follow-Up Testing

PET and CT imaging may have higher sensitivity than contrast-enhanced CT imaging when recurrent sarcoma is suspected. Late recurrences (more than 5 years from initial diagnosis) are seen with some histologies, such as synovial sarcoma or alveolar soft-part sarcoma.[17,18]

Evidence (posttreatment imaging surveillance):

1. A retrospective review included 174 consecutive patients with soft tissue sarcoma of the limb who underwent follow-up by oncologists at a single center from 2003 to 2009.[19][Level of evidence C2] The rate and site of recurrence and mode of detection were analyzed. The following results were reported:
  a. Eighty-two patients (47%) experienced relapse.
  b. Isolated local recurrences occurred in 26 patients, and local relapse with synchronous pulmonary metastases occurred in 5 patients.
    - Local recurrences were detected clinically in 30 of the 31 patients.
    - MRI identified only one local recurrence.
  c. Twenty-eight patients (16%) developed isolated lung metastases.
    - The lung metastases were amenable to resections in nine patients, seven of whom were free of disease after treatment.
    - Lung metastases were detected by chest x-ray in 19 patients, by CT scan in 3 patients, and clinically in 11 patients.
  d. Twenty-three patients developed nonpulmonary metastases.
  e. More than 80% of the relapses occurred in the first 2 years of follow-up. Later recurrences were also observed.

This study supports imaging surveillance for detection of lung metastases. Local recurrences at the primary site were usually detected by clinical examination. The impact of metastases detection on overall survival or quality of life is unknown.[19]

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Wibmer C, Leithner A, Zielonke N, et al.: Increasing incidence rates of soft tissue sarcomas? A population-based epidemiologic study and literature review. Ann Oncol 21 (5): 1106-11, 2010.19858086
National Cancer Institute: SEER Cancer Stat Facts: Soft Tissue including Heart Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/soft.html). Last accessed February 21, 2025.
Singer S, Antonescu CR: Molecular biology of sarcomas. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1384-99.
Singer S, Tap WD, Kirsch DG: Soft tissue sarcoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1400-49.
O’Donnell RJ, DuBois SG, Haas-Kogan DA: Sarcomas of bone. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1450-74.
Coindre JM, Terrier P, Guillou L, et al.: Predictive value of grade for metastasis development in the main histologic types of adult soft tissue sarcomas: a study of 1240 patients from the French Federation of Cancer Centers Sarcoma Group. Cancer 91 (10): 1914-26, 2001.11346874 21244394
Kasper B, Ouali M, van Glabbeke M, et al.: Prognostic factors in adolescents and young adults (AYA) with high risk soft tissue sarcoma (STS) treated by adjuvant chemotherapy: a study based on pooled European Organisation for Research and Treatment of Cancer (EORTC) clinical trials 62771 and 62931. Eur J Cancer 49 (2): 449-56, 2013.22975215
Zagars GK, Ballo MT, Pisters PW, et al.: Prognostic factors for patients with localized soft-tissue sarcoma treated with conservation surgery and radiation therapy: an analysis of 1225 patients. Cancer 97 (10): 2530-43, 2003.12733153
Trovik LH, Ovrebo K, Almquist M, et al.: Adjuvant radiotherapy in retroperitoneal sarcomas. A Scandinavian Sarcoma Group study of 97 patients. Acta Oncol 53 (9): 1165-72, 2014.25000415
Gronchi A, Miceli R, Shurell E, et al.: Outcome prediction in primary resected retroperitoneal soft tissue sarcoma: histology-specific overall survival and disease-free survival nomograms built on major sarcoma center data sets. J Clin Oncol 31 (13): 1649-55, 2013.23530096
Callegaro D, Miceli R, Bonvalot S, et al.: Development and external validation of two nomograms to predict overall survival and occurrence of distant metastases in adults after surgical resection of localised soft-tissue sarcomas of the extremities: a retrospective analysis. Lancet Oncol 17 (5): 671-80, 2016.27068860
Raut CP, Callegaro D, Miceli R, et al.: Predicting Survival in Patients Undergoing Resection for Locally Recurrent Retroperitoneal Sarcoma: A Study and Novel Nomogram from TARPSWG. Clin Cancer Res 25 (8): 2664-2671, 2019.30723141
Callegaro D, Miceli R, Bonvalot S, et al.: Development and external validation of a dynamic prognostic nomogram for primary extremity soft tissue sarcoma survivors. EClinicalMedicine 17: 100215, 2019.31891146
Vraa S, Keller J, Nielsen OS, et al.: Prognostic factors in soft tissue sarcomas: the Aarhus experience. Eur J Cancer 34 (12): 1876-82, 1998.10023309 99147390
Yang JC, Chang AE, Baker AR, et al.: Randomized prospective study of the benefit of adjuvant radiation therapy in the treatment of soft tissue sarcomas of the extremity. J Clin Oncol 16 (1): 197-203, 1998.9440743 98101693
Krieg AH, Hefti F, Speth BM, et al.: Synovial sarcomas usually metastasize after >5 years: a multicenter retrospective analysis with minimum follow-up of 10 years for survivors. Ann Oncol 22 (2): 458-67, 2011.20716627
Guadagnolo BA, Zagars GK, Ballo MT, et al.: Long-term outcomes for synovial sarcoma treated with conservation surgery and radiotherapy. Int J Radiat Oncol Biol Phys 69 (4): 1173-80, 2007.17689031
Rothermundt C, Whelan JS, Dileo P, et al.: What is the role of routine follow-up for localised limb soft tissue sarcomas? A retrospective analysis of 174 patients. Br J Cancer 110 (10): 2420-6, 2014.24736584

## Cellular Classification of Soft Tissue Sarcoma

Soft tissue sarcomas are heterogeneous, with more than 100 different entities described in the World Health Organization (WHO) 2020 classification.[1]

Soft tissue sarcomas are classified histologically according to the presumed tissue of origin. Immunohistochemistry, flow cytometry, molecular profiling, and, rarely, electron microscopy may identify particular subtypes within the major histological categories. Some subtypes of sarcomas are characterized by genetic events such as chromosomal translocations (e.g., translocation t(X;18)(p11;q11) in synovial sarcomas and translocation t(12;16)(q13;p11) in myxoid liposarcomas).[2-4]

### References

WHO Classification of Tumours Editorial Board, eds: Soft Tissue and Bone Tumours. IARC Press; 2020. WHO Classification of Tumours. 5th ed; Vol 3.
Singer S, Antonescu CR: Molecular biology of sarcomas. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1384-99.
Singer S, Tap WD, Kirsch DG: Soft tissue sarcoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1400-49.
O’Donnell RJ, DuBois SG, Haas-Kogan DA: Sarcomas of bone. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1450-74.

## Stage Information for Soft Tissue Sarcoma

### Staging Evaluation

In addition to histology, identifying the location and extent of disease (e.g., localized, locally advanced, metastatic) is important in determining the most effective initial treatment for patients with soft tissue sarcoma.[1]

Imaging tests used in the staging evaluation may include:[1-5]

- Magnetic resonance imaging (MRI) and/or computed tomography (CT) scan of the primary tumor area.
- Chest CT scan for high-grade sarcomas to look for metastasis to the lung (the most common site of distant spread).
- Abdominal/pelvic CT scan.
- Positron emission tomography (PET) scan.

Some staging evaluation procedures depend on the tumor histology and site, including:

- CT scan of the abdomen and pelvis and whole spine MRI for round cell and myxoid liposarcomas, as these histologies can have extrapulmonary spread to unusual sites.[6]
- Brain imaging for subtypes that have a higher propensity for central nervous system involvement, such as angiosarcoma, epithelioid sarcoma, or alveolar soft-part sarcoma.

Knowledge of intracompartmental or extracompartmental extension of extremity sarcomas is important for surgical decision making. For complete staging, a thorough review of all biopsy specimens, including those from the primary tumor, lymph nodes, or other suspicious lesions, is essential. Nodal involvement is rare, occurring in less than 3% of patients with sarcoma, but it occurs more often in certain subtypes, such as rhabdomyosarcoma, angiosarcoma, synovial sarcoma, clear cell sarcoma, and epithelioid sarcoma.[7,8]

### American Joint Committee on Cancer (AJCC) Staging System

The 2017 AJCC/Union for International Cancer Control (UICC) cancer staging classification system recommends the use of the three-tiered French Federation of Comprehensive Cancer Centers (Fédération Nationale des Centres de Lutte Contre Le Cancer [FNCLCC]) Sarcoma Group grading schema. Prognostic factors required for stage grouping are from FNCLCC. The definitions of grade are provided in Table 6. Of note, staging is primarily used as a research tool and does not routinely impact decision making outside of the factors listed above (sarcoma subtype and grade, primary location, extent of disease [localized, locally advanced, distant metastases]).

The AJCC staging system has designated stage by the following criteria:[1-5]

- Tumor size, nodal status, metastasis, histological grade (TNMG).
- Anatomical primary tumor site (head and neck, trunk and extremities, abdomen and thoracic visceral organs, retroperitoneum, and unusual histologies and sites).

For information on unusual histologies and sites, see the eighth edition of the AJCC Cancer Staging Manual,[1] which indicates that the TNMG staging classification has different T staging criteria and prognostic groups based on the primary tumor site (see Table 1). The characteristic molecular markers of some sarcomas are not formally incorporated in the staging system pending further evaluation of their impact on prognosis.[2-5]

Recurrent sarcomas are restaged using the same system that is used for primary tumors, with the notation that the tumor is recurrent.

#### TNM definitions

Table 1. Definitions of Primary Tumor (T) for Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum; Head and Neck; and Abdomen and Thoracic Visceral Organs^a^

T Category | Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum | Soft Tissue Sarcoma of the Head and Neck | Soft Tissue Sarcoma of the Abdomen and Thoracic Visceral Organs
TX | Primary tumor cannot be assessed. | Primary tumor cannot be assessed. | Primary tumor cannot be assessed.
T0 | No evidence of primary tumor.
T1 | Tumor ≤5 cm in greatest dimension. | Tumor ≤2 cm. | Organ confined.
T2 | Tumor >5 cm and ≤10 cm in greatest dimension. | Tumor >2 to ≤4 cm. | Tumor extension into tissue beyond organ.
–T2a | | | Invades serosa or visceral peritoneum.
–T2b | | | Extension beyond serosa (mesentery).
T3 | Tumor >10 cm and ≤15 cm in greatest dimension. | Tumor >4 cm. | Invades another organ.
T4 | Tumor >15 cm in greatest dimension. | Tumor with invasion of adjoining structures. | Multifocal involvement.
–T4a | | Tumor with orbital invasion, skull base/dural invasion, invasion of central compartment viscera, involvement of facial skeleton, or invasion of pterygoid muscles. | Multifocal (2 sites).
–T4b | | Tumor with brain parenchymal invasion, carotid artery encasement, prevertebral muscle invasion, or central nervous system involvement via perineural spread. | Multifocal (3–5 sites).
–T4c | | | Multifocal (>5 sites).

^a^Adapted from O'Sullivan et al.,[2] Yoon et al.,[3] Raut et al.,[4] and Pollock et al.[5]

Table 2. Definitions of Regional Lymph Node (N) for Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum; Head and Neck; and Abdomen and Thoracic Visceral Organs^a^

N Category | Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum | Soft Tissue Sarcoma of the Head and Neck | Soft Tissue Sarcoma of the Abdomen and Thoracic Visceral Organs
N0 | No regional lymph node metastasis or unknown lymph node status. | No regional lymph node metastasis or unknown lymph node status. | No lymph node involvement or unknown lymph node status.
N1 | Regional lymph node metastasis. | Regional lymph node metastasis. | Lymph node involvement present.

^a^Adapted from O'Sullivan et al.,[2] Yoon et al.,[3] Raut et al.,[4] and Pollock et al.[5]

Table 3. Definitions of Distant Metastasis (M) for Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum; Head and Neck; and Abdomen and Thoracic Visceral Organs^a^

M Category | Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum | Soft Tissue Sarcoma of the Head and Neck | Soft Tissue Sarcoma of the Abdomen and Thoracic Visceral Organs
M0 | No distant metastasis. | No distant metastasis. | No metastasis.
M1 | Distant metastasis. | Distant metastasis. | Metastasis present.

^a^Adapted from O'Sullivan et al.,[2] Yoon et al.,[3] Raut et al.,[4] and Pollock et al.[5]

#### FNCLCC histological grade

The histological grade of the sarcoma is an important factor in staging all soft tissue sarcomas. It is determined by the following three parameters:

- Histology-specific tumor differentiation (see Table 4).
- Mitotic activity.
- Extent of tumor necrosis.

The purpose of the grading system is to predict which patients will develop metastasis and therefore benefit from postoperative chemotherapy.[9,10] Each parameter is scored, and the scores are then added to determine the FNCLCC histological grade (see Table 5 and Table 6).

Table 4. Histology-Specific Tumor Differentiation Score^a^

Histology Type | Score
Atypical lipomatous tumor/well-differentiated liposarcoma | 1
Myxoid liposarcoma | 2
Round cell liposarcoma | 3
Pleomorphic liposarcoma | 3
Dedifferentiated liposarcoma | 3
Fibrosarcoma | 2
Myxofibrosarcoma | 2
Undifferentiated pleomorphic sarcoma (formerly termed malignant fibrous histiocytoma, pleomorphic type) | 3
Well-differentiated leiomyosarcoma | 1
Conventional leiomyosarcoma | 2
Poorly differentiated/pleomorphic/epithelioid leiomyosarcoma | 3
Biphasic/monophasic synovial sarcoma | 3
Poorly differentiated synovial sarcoma | 3
Pleomorphic rhabdomyosarcoma | 3
Mesenchymal chondrosarcoma | 3
Extraskeletal osteosarcoma | 3
Ewing sarcoma/primitive neuroectodermal tumor (PNET) | 3
Malignant rhabdoid tumor | 3
Undifferentiated sarcoma, not otherwise specified | 3

^a^Reprinted with permission from AJCC: Introduction to Soft Tissue Sarcoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 489–496.

Table 5. Determinants of FNCLCC Histological Grade^a^

Determinants and Scores | Description
Tumor Differentiation
Score 1 | Sarcoma closely resembling normal adult mesenchymal tissue (e.g., low-grade liposarcoma)
Score 2 | Sarcomas for which histological typing is certain (e.g., myxoid/round cell liposarcoma)
Score 3 | Embryonal and undifferentiated sarcomas, sarcomas of doubtful type, synovial sarcomas, soft tissue osteosarcoma, Ewing sarcoma/primitive neuroectodermal tumor (PNET) of soft tissue
Mitotic Count
Score 1 | 0–9 mitoses per 10 HPF
Score 2 | 10–19 mitoses per 10 HPF
Score 3 | ≥20 mitoses per 10 HPF
Tumor Necrosis
Score 0 | No necrosis
Score 1 | <50% tumor necrosis
Score 2 | ≥50% tumor necrosis

FNCLCC = Fédération Nationale des Centres de Lutte Contre Le Cancer; HPF = high-power field.

^a^Adapted from Pollock et al.[11]

Table 6. Definition of FNCLCC Histological Grade (G)^a^

G | G Definition
GX | Grade cannot be assessed.
G1 | Total tumor differentiation, mitotic count, and necrosis score of 2 or 3.
G2 | Total tumor differentiation, mitotic count, and necrosis score of 4 or 5.
G3 | Total tumor differentiation, mitotic count, and necrosis score of 6, 7, or 8.

FNCLCC = Fédération Nationale des Centres de Lutte Contre Le Cancer.

^a^Reprinted with permission from AJCC: Soft tissue sarcoma of the head and neck. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 499–505.

#### Prognostic stage groups

There is no recommended prognostic stage grouping for soft tissue sarcoma of the abdomen, thoracic visceral organs, and head and neck.

Table 7. AJCC Prognostic Stage Groups for Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum^a^

Stage | Tumor | Node | Metastasis | Grade
IA | T1 | N0 | M0 | GX, G1
IB | T2, T3, T4 | N0 | M0 | GX, G1
II | T1 | N0 | M0 | G2, G3
IIIA | T2 | N0 | M0 | G2, G3
IIIB | T3, T4 | N0 | M0 | G2, G3
IIIB^b^/IV^b^ | Any T | N1 | M0 | Any G
IV | Any T | Any N | M1 | Any G

T = primary tumor; N = regional lymph node; M = distant metastasis; G = grade.

^a^Adapted from Yoon et al.[3] and Pollock et al.[5]

^b^Stage IIIB for soft tissue sarcoma of the retroperitoneum; stage IV for soft tissue sarcoma of the trunk and extremities.

### References

Maki RG, Folpe AL, Guadagnolo BA, et al.: Soft tissue sarcoma - unusual histologies and sites. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 539-45.
O'Sullivan B, Maki RG, Agulnik M, et al.: Soft tissue sarcoma of the head and neck. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 499-505.
Yoon SS, Maki RG, Asare EA, et al.: Soft tissue sarcoma of the trunk and extremities. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 507-15.
Raut CP, Maki RG, Baldini EH, et al.: Soft tissue sarcoma of the abdomen and thoracic visceral organs. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 517-21.
Pollock RE, Maki RG, Baldini EH, et al.: Soft tissue sarcoma of the retroperitoneum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 531-7.
Schwab JH, Boland P, Guo T, et al.: Skeletal metastases in myxoid liposarcoma: an unusual pattern of distant spread. Ann Surg Oncol 14 (4): 1507-14, 2007.17252290
Fong Y, Coit DG, Woodruff JM, et al.: Lymph node metastasis from soft tissue sarcoma in adults. Analysis of data from a prospective database of 1772 sarcoma patients. Ann Surg 217 (1): 72-7, 1993.8424704 93143413
Mazeron JJ, Suit HD: Lymph nodes as sites of metastases from sarcomas of soft tissue. Cancer 60 (8): 1800-8, 1987.3308055
Coindre JM, Terrier P, Guillou L, et al.: Predictive value of grade for metastasis development in the main histologic types of adult soft tissue sarcomas: a study of 1240 patients from the French Federation of Cancer Centers Sarcoma Group. Cancer 91 (10): 1914-26, 2001.11346874 21244394
Guillou L, Coindre JM, Bonichon F, et al.: Comparative study of the National Cancer Institute and French Federation of Cancer Centers Sarcoma Group grading systems in a population of 410 adult patients with soft tissue sarcoma. J Clin Oncol 15 (1): 350-62, 1997.8996162
Pollock RE, Maki RG: Introduction to soft tissue sarcoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 489-97.

## Treatment Option Overview for Soft Tissue Sarcoma

### Planning Therapy

Complete staging and treatment planning by a multidisciplinary team of cancer specialists is required to determine the optimal treatment for patients with soft tissue sarcoma. In most cases, a combined modality approach of preoperative radiation therapy (preRT) or postoperative radiation therapy (PORT) is used for treatment, rather than a radical surgical procedure such as amputation. Surgery without PORT may be possible in selected cases. The role of chemotherapy is not well defined.

#### Specialized centers

There is evidence that favorable clinical outcomes may be associated with referral to a specialized sarcoma treatment center.

Evidence (referral to a specialized sarcoma treatment center):

1. An analysis of a population-based consecutive series of 375 patients with soft tissue sarcoma in Sweden reported the following results:[1][Level of evidence C2]
  - The local recurrence rate was 45% (35 of 78 patients) in patients who were not referred.
  - The local recurrence rate was 24% (24 of 102 patients) in patients who were referred after initial surgery or incisional biopsy.
  - The local recurrence rate was 18% (36 of 195 patients) in patients who were referred before any surgical procedure.
  - Local recurrence rates in patients with resected tumors were higher in those who were not referred (for the primary tumor) to the specialized center (P = .0001 for the difference between those not referred vs. those referred before any surgical procedure).
  - There were no statistically significant differences in death from sarcoma among the groups.
2. A British study of 260 patients with soft tissue sarcoma diagnosed within a 3-year period reported the following results:[2]
  - Thirty-seven percent of the patients had most of their treatment at a specialized center.
  - The remaining 63% were treated at 38 different hospitals.
  - The rate of local recurrence was 19% for patients treated at the specialized center.
  - The rate of local recurrence was 39% for patients treated at the district general hospitals, even though the tumors in these patients were smaller and of lower grade.
  - The most significant factors affecting survival were tumor grade (high grade vs. low grade) and the depth of the tumor.
  - Patients treated at the specialized center had a small survival advantage after multivariate analysis.

### Treatment Options for Soft Tissue Sarcoma

Table 8. Treatment Options for Soft Tissue Sarcoma

Stage (TNMG Staging Criteria) | | Treatment Options
Stage I soft tissue sarcoma | | Surgery
Stage I soft tissue sarcoma | | Surgery with radiation therapy
Stage I soft tissue sarcoma | | High-dose radiation therapy
Stage II and node-negative stage III soft tissue sarcoma | | Surgery
Stage II and node-negative stage III soft tissue sarcoma | | Surgery with radiation therapy
Stage II and node-negative stage III soft tissue sarcoma | | Radiation therapy and/or chemotherapy followed by surgery
Stage II and node-negative stage III soft tissue sarcoma | | High-dose radiation therapy
Advanced stage III (N1) soft tissue sarcoma | | Surgery and lymphadenectomy
Advanced stage III (N1) soft tissue sarcoma | | Surgery with neoadjuvant or adjuvant therapy
Stage IV soft tissue sarcoma | | Chemotherapy
Stage IV soft tissue sarcoma | | Histology-specific targeted or immunotherapy treatment
Stage IV soft tissue sarcoma | | Surgery
Recurrent soft tissue sarcoma | | Surgery with or without radiation therapy
Recurrent soft tissue sarcoma | | Chemotherapy and targeted therapy
Recurrent soft tissue sarcoma | | Immune checkpoint inhibitor therapy (under clinical evaluation)

T = primary tumor; N = regional lymph node; M = distant metastasis; G = grade.

### Surgery

Surgical resection is the mainstay of therapy for soft tissue sarcomas.

In some small low-grade tumors of the extremities or trunk, surgery alone can be performed without the use of radiation. Evidence for this approach is limited to single-institution, relatively small case series [3-5] or analysis of outcomes in the National Cancer Institute's Surveillance, Epidemiology, and End Results (SEER) Program tumor registry.[6] These comparisons suffer from low statistical power and differential evaluability rates that could have introduced bias.[3]

Patient selection factors may vary among surgeons. In general, surgery alone is considered in patients with low-grade tumors of the extremity or superficial trunk that are 5 cm or smaller in diameter (T1) and have microscopically negative surgical margins. In these patients, the rate of long-term local tumor control is about 90%.[7]

#### Extremity tumors

When feasible, wide-margin function-sparing surgical excision is the cornerstone of effective treatment for extremity tumors. This may be facilitated by soft tissue reconstructive surgery, which generally permits wider margins than those obtained when the surgical plan involves direct closure of the excision site.[8] Cutting into the tumor mass or shelling out the gross tumor is associated with an elevated risk of local recurrence. Even for high-grade disease, soft tissue sarcomas of the extremities can usually be effectively treated while preserving the limb with combined-modality treatment consisting of preRT or PORT to reduce local recurrence.[9] For more information, see the Radiation Therapy section.

Evidence (amputation vs. limb-sparing surgery):

1. A retrospective study analyzed a prospective sarcoma database of 649 patients with extremity soft tissue sarcoma. Ninety-two patients underwent amputation, and 557 patients had a limb-sparing procedure. Patients who underwent amputation had large (≥5 cm) high-grade tumors that invaded major vascular or nervous structures.[10]
  - The patients who underwent amputation achieved significantly better local control than the patients who had a limb-sparing procedure (P = .007).
  - However, no survival benefit was demonstrated in the patients selected for amputation (i.e., patients with large high-grade tumors) when compared with patients undergoing a limb-sparing procedure with similar tumors.
  - Prevention of local recurrence by amputation did not improve survival in this group compared with similar patients undergoing limb-sparing surgery who did develop a local recurrence.
2. A retrospective study included 769 patients with a high-grade sarcoma of the extremities who underwent a limb-sparing surgery. Eighty-nine patients were treated with neoadjuvant radiation therapy, 315 patients were treated with adjuvant irradiation, and 365 patients were treated with surgery alone.[11]
  - After a mean follow-up of 45 months, 95 local recurrences occurred, resulting in a local recurrence-free survival rate of 83.2% after 5 years and 75.9% after 10 years.
  - Neoadjuvant radiation therapy provided the best local recurrence-free rate for 5 years (90.0%), but after 10 years (78.3%) adjuvant irradiation resulted in better local control.
  - Patients treated with neoadjuvant radiation therapy had the highest rate of revision surgery (9.0%), followed by patients who were treated with surgery alone (5.5%) and patients who received adjuvant irradiation (4.4%) (P = .085).

#### Trunk and head/neck tumors

Local control of high-grade soft tissue sarcomas of the trunk and the head and neck can be achieved with surgery in combination with radiation therapy.[12] Surgery without PORT may be possible in selected patients. A case series was reported from a specialized sarcoma treatment referral center, in which 74 selected patients with primary extremity and trunk tumors 5 cm or smaller were found to have no histological involvement of the surgical margins.[3] These patients were observed without radiation therapy, and the estimated local recurrence rate after 10 years was 11%.[3][Level of evidence C3]

#### Retroperitoneal tumors

Effective treatment of retroperitoneal sarcomas requires removal of all gross disease while sparing adjacent viscera not invaded by tumor. The prognosis for patients with high-grade retroperitoneal sarcomas is less favorable than for patients with tumors at other sites, partly because of the difficulty in completely resecting these tumors and the dose-limiting toxicity of high-dose radiation therapy on visceral organs.[13-16]

Local disease control is crucial in patients with retroperitoneal sarcomas. Disease-specific mortality caused by local recurrence (without synchronous metastasis) was reported in up to 77% of patients with retroperitoneal sarcomas compared with 9% of patients with extremity or trunk sarcomas.[17] An additional consideration in retroperitoneal sarcomas is the extent of surgery.

Evidence (extended surgical resection):

1. A series of 382 patients with retroperitoneal sarcoma in a multivariate analysis showed the following results:[18]
  - Patients treated with extended surgical resection had a 3.3-fold lower rate of local recurrence compared with patients who underwent simple complete resection.
  - Extended surgical resection was not associated with improved survival.
  - In a follow-up analysis, a 66% overall survival (OS) rate was observed in the extended surgical resection cohort compared with a 48% OS rate in historic controls.[19]

An extended surgical approach has to be weighed against an increase in morbidity (resulting from surgical complications) and mortality.[20-23]

#### Metastatic disease

In the setting of distant metastasis, surgery may be associated with long-term disease-free survival (DFS) in patients with pulmonary metastasis and optimal underlying disease biology. This includes patients with a limited number of metastases and slow nodule growth who have undergone or are undergoing complete resection of the primary tumor.[24-26] It is not clear to what degree the favorable outcomes are attributable to the efficacy of surgery or the careful selection of patients based on factors that are associated with less-aggressive disease.

### Radiation Therapy

A patterns-of-care study using SEER data was queried to identify patients undergoing surgery for trunk and extremity soft tissue sarcomas from 2004 to 2009.[27] Of 5,075 patients, 50% received radiation therapy. Radiation therapy was not given as recommended in a significant portion of patients undergoing treatment for soft tissue sarcoma in the United States. Although routine radiation therapy is not recommended for patients with stage I disease, 25% of them still underwent radiation. Even though routine radiation therapy is recommended for patients with stage II and III tumors, only 60% of them underwent radiation. The multivariate analysis identified predictors of radiation therapy efficacy:[27][Level of evidence C2]

- Age younger than 50 years (odds ratio [OR], 1.57; 95% confidence interval [CI], 1.28–1.91).
- Malignant fibrous histiocytoma histology (OR, 1.47; 95% CI, 1.3–1.92).
- T2 disease (OR, 1.88; 95% CI, 1.60–2.20).
- High tumor grade (G3) (OR, 6.27; 95% CI, 5.10–7.72).

Patients with stage III soft tissue sarcoma who received radiation therapy showed improved disease-specific survival at 5 years, compared with those who did not receive radiation therapy (68% vs. 46%, P < .001).

Sometimes the initial management of soft tissue sarcoma cannot include surgical excision because the morbidity would be unacceptable, or nearby critical organs make complete resection impossible. In such circumstances, radiation has been used as the primary therapy;[28] however, this must be considered a treatment of last resort. Experience of radiation as the primary therapy is limited to retrospective case series from single centers.[28][Level of evidence C3]

#### Extremity and trunk tumors

Radiation plays an important role in limb-sparing therapy. Pre- and postoperative radiation therapy has been shown to decrease the risk of local recurrence. These techniques have not prolonged OS in prospective trials, but they are used to avoid amputation for all but the most locally advanced tumors or in limbs seriously compromised by vascular disease, where acceptable functional preservation is not possible. In the case of external-bean radiation therapy (EBRT), irradiation of the entire limb circumference is avoided to preserve vascular and nerve structures that are critical to retain the function of the limb.

Evidence (PORT):

1. PORT has been tested in a single-institution randomized trial of 141 patients with extremity sarcomas who were treated with limb-sparing surgery. Patients with high-grade tumors (n = 91) also received adjuvant chemotherapy (five 28-day cycles of doxorubicin and cyclophosphamide). Patients were randomly assigned to receive either radiation therapy (45 Gy to a wide field, plus a tumor-bed boost of 18 Gy over 6–7 weeks) concurrently with chemotherapy (in the case of high-grade tumors) or no radiation.[29][Level of evidence B1]
  - At up to 12 years of follow-up, there was one local recurrence in the 70 patients randomly assigned to receive radiation therapy versus 17 recurrences in the 71 control patients (P = .0001). There was a similar reduction in risk of local recurrence for both high- and low-grade tumors.
  - There was no difference in OS between the radiation therapy group and the control group.
  - Global quality of life was similar in the two groups, but the radiation therapy group had substantially worse functional deficits resulting from reduced strength, reduced joint motion, and increased edema.

To limit acute toxicity, smaller fields and lower doses of radiation are generally given with preRT than with PORT. PreRT has been directly compared with PORT for extremity soft tissue sarcomas in a multicenter randomized trial, and no significant difference in local control or OS rates was found.[30-32]

Evidence (preRT vs. PORT):

1. Though designed to include 266 patients, a trial was stopped after 190 patients were accrued because wound complications in the preRT group had increased. In the first phase of the trial, patients in the preRT group received wide-field radiation therapy of 50 Gy (in 2-Gy fractions). In the second phase of the trial, patients received an additional 16 Gy to 20 Gy to the tumor bed and a 2-cm margin (only if tumor cells were found at the surgical margins). Patients in the PORT group received radiation therapy during both phases of the trial.[30-32]
  - The wound complication rates were 35% in the preRT group and 17% in the PORT group (P = .01). In addition, limb function at 6 weeks after surgery was worse in the preRT group (P = .01).[30]
  - At 5 years, the two groups had similar local control rates (93% for the preRT group vs. 92% for the PORT group) and OS rates (73% for the preRT group vs. 67% for the PORT group; P = .48).[31]
  - Of the 129 patients evaluated for limb function at 21 to 27 months after surgery (n = 73 for preRT and n = 56 for PORT), limb function was similar in both groups, but there was a statistical trend for less fibrosis in the preRT group (P = .07).[32]

Brachytherapy has also been investigated as an adjuvant therapy for soft tissue sarcomas. Although brachytherapy has the possible advantages of convenience and giving less radiation to normal surrounding tissue relative to EBRT, the two treatment strategies have not been directly compared in terms of efficacy or morbidity. However, adjuvant brachytherapy has been compared with surgery without radiation.

Evidence (surgery followed by brachytherapy vs. surgery alone):

1. In a single-institution trial, 164 patients with sarcomas of the extremity or superficial trunk were randomly assigned during surgery (if all gross tumor could be excised) to receive an iridium Ir 192 implant delivering 42 Gy to 45 Gy over 4 to 6 days (78 patients) or to a control arm of no radiation (86 patients).[33,34] Thirty-four patients in each study arm with high-grade tumors who were believed to be at risk for metastasis received adjuvant doxorubicin-based chemotherapy.[33][Level of evidence B1]
  - With a median follow-up of 76 months, the 5-year actuarial local recurrence rates were 18% in the brachytherapy arm and 31% in the control arm (P = .04). This difference was limited to patients with high-grade tumors.
  - There was no discernible difference in sarcoma-specific survival rates between the brachytherapy arm (84%) and control arm (81%) (P = .65), and there was no difference in patients with high-grade tumors.
  - The rates of clinically important wound complications (e.g., the need for operative revision or repeated seroma drainage, wound separation, large hematomas, or purulent infection) were 24% in the brachytherapy arm and 14% in the control arm (P = .13). The wound reoperation rates were 10% in the brachytherapy arm and 0% in the control arm (P = .006).[34]

Intensity-modulated radiation therapy (IMRT) has been used to deliver preRT or PORT to patients with extremity soft tissue sarcomas to spare the femur, joints, and selected other normal tissues from the full prescription dose, and thus maintain local control while potentially reducing radiation therapy–related morbidity. Initial single-institution reports suggest that high rates of local control with some reduction in morbidity are possible with IMRT.[35,36]

Retrospective comparison of IMRT and 3-dimensional, conformal radiation therapy demonstrated that local recurrence for primary soft tissue sarcomas of the extremity was worse in the non-IMRT group.[37][Level of evidence C3]

#### Retroperitoneal tumors

Retrospective data support the use of preRT or PORT versus surgery alone to treat retroperitoneal sarcomas.

Evidence (preRT or PORT vs. surgery alone):

1. Outcomes from a total of 9,068 patients in two case-control studies conducted between 2003 and 2011 were analyzed.[38]
  The 2,196 patients who received PORT were compared with 2,196 matched controls.
  - The median OS was 89 months for the patients in the PORT group versus 64 months for the patients who did not receive radiation therapy.
  - The 5-year survival rate was 60% for the patients in the PORT group and 52% for the patients who did not receive radiation therapy.
  The 563 patients who received preRT were compared with 1,126 matched controls.[38]
  - The median OS was 110 months for the patients who received preRT versus 66 months for the patients who did not receive radiation therapy.
  - The 5-year survival rate was 62% for the patients who received preRT versus 54% for the patients who did not receive radiation therapy.
2. Two small prospective studies explored the role of neoadjuvant radiation therapy in patients with intermediate- or high-grade retroperitoneal sarcomas. In a combined analysis of the 54 patients who underwent R0 resection (resection for cure or complete remission) or R1 resection (resection to microscopic residual tumor) after preRT, the following results were reported:[39]
  - The 5-year local relapse-free survival (RFS) rate was 60%.
  - The 5-year DFS rate was 60%.
  - The 5-year OS rate was 61%. The median OS had not been reached (>60 months) at the time of the report.

### Chemotherapy

#### Adjuvant chemotherapy for clinically localized tumors

The role of adjuvant chemotherapy remains controversial. Any potential benefits should be considered in the context of the short- and long-term toxicities of the chemotherapy regimen.

Several prospective, randomized trials were unable to determine conclusively whether doxorubicin-based adjuvant chemotherapy benefits adults with resectable soft tissue sarcomas. Most of these studies accrued small numbers of patients and did not demonstrate a metastasis-free survival or an OS benefit from adjuvant chemotherapy.[12] There was wide interstudy variability among the reported trials, including differences in therapeutic regimens, drug doses, sample sizes, tumor sites, and tumor histological grades.

Evidence (doxorubicin-based adjuvant chemotherapy):

1. A quantitative meta-analysis of updated data from 1,568 individual patients in 14 trials of doxorubicin-based adjuvant chemotherapy was reported. Only a small proportion of patients in this meta-analysis were treated with ifosfamide, an agent with demonstrated activity against soft tissue sarcoma.[40,41][Level of evidence B1] The following results were reported:
  - An absolute benefit from adjuvant chemotherapy of 6% for local relapse-free interval (95% CI, 1%–10%), 10% for distant relapse-free interval (95% CI, 5%–15%), and 10% for RFS (95% CI, 5%–15%).
  - No statistically significant OS benefit at 10 years was detected; the absolute difference was 4% (95% CI, -1% to +9%).
  - A subset analysis suggested that patients with sarcomas of the extremities may have benefited from adjuvant chemotherapy, with a reported 7% absolute OS improvement at 10 years (hazard ratio [HR]_death_, 0.8; P = .029).[41]

Subsequent chemotherapy trials were performed using anthracycline and ifosfamide combinations in patients who primarily had extremity or trunk soft tissue sarcomas. The data are conflicting.

Evidence (anthracycline and ifosfamide or cyclophosphamide combinations):

1. In a small feasibility study, 59 patients with high-risk soft tissue sarcomas (58 of whom had an extremity or the trunk as the primary site) underwent primary resection plus PORT. They were then randomly assigned to observation versus a dose-dense regimen of six 14-day cycles of ifosfamide, dacarbazine (DTIC), and doxorubicin (IFADIC regimen) with granulocyte colony-stimulating factor (G-CSF) bone marrow support.[42]
  - There were no statistically significant differences in OS or RFS. However, the study was severely underpowered.
2. In a second trial performed by the Italian National Council for Research, high-risk patients were treated with local therapy (wide resection plus preRT or PORT, or amputation as clinically necessary) and were then randomly assigned to observation versus five 21-day cycles of 4-epidoxorubicin (epirubicin) plus ifosfamide (with mesna and G-CSF).[43,44]
  - Based on power calculations, the planned study size was 190 patients, but the trial was stopped after 104 patients had been entered because an interim analysis revealed a statistically significant (P = .001) difference in DFS favoring the chemotherapy arm. By the time of the initial peer-reviewed report of the study, the DFS still favored the chemotherapy arm (median DFS of 48 months vs. 16 months), but the P value had risen to .04.[43]
  - Although there was no difference in metastasis-free survival at the time of the report, there was an improvement in median OS (75 months for the chemotherapy arm vs. 46 months for the observation arm; P = .03).
  - At the follow-up report (median follow-up of 89.6 months in a range of 56–119 months), OS differences were no longer statistically significant (58.5% in the chemotherapy arm vs. 43.1% in the observation arm; P = .07).[44]
  - The DFS difference had also lost statistical significance (47.2% in the chemotherapy arm vs. 16.0% in the observation arm; P = .09).[44]
  In summary, the trial was underpowered because it was stopped early, and the promising early results that led to stopping the trial diminished as the trial matured.
3. In a third, underpowered, single-center trial, 88 patients with high-risk soft tissue sarcomas (64 with extremity or trunk primary tumors) underwent surgery (with or without radiation) and were then randomly assigned to receive four 21-day cycles of chemotherapy, epirubicin (n = 26) or epirubicin plus ifosfamide (n = 19), versus no adjuvant chemotherapy (n = 43).[45] The trial was closed prematurely because of a slow accrual rate.
  - After a median follow-up of 94 months, the 5-year DFS rates were 69% in the chemotherapy arm and 44% in the control arm (P = .01).
  - The 5-year OS rates were 72% in the chemotherapy arm and 47% in the control arm (P = .06).
  - All the benefit associated with chemotherapy appeared restricted to the 19 patients who received epirubicin plus ifosfamide.
4. In another underpowered trial, 134 patients with high-risk soft tissue sarcomas (93% with extremity or trunk primary tumors) were randomly assigned to undergo surgical resection (with or without radiation) or to receive three preoperative 21-day cycles of doxorubicin plus ifosfamide.[46] This multicenter trial from the European Organisation for Research and Treatment of Cancer (EORTC) (EORTC-62874 (http://www.eortc.org/research_field/clinical-detail/62874/)) was closed because of slow accrual and results that were not promising enough to warrant continuation of the trial.
  - With a median follow-up of 7.3 years, the 5-year DFS rates were 52% in the surgery-alone arm and 56% in the chemotherapy-plus-surgery arm (P = .35).
  - The 5-year OS rates were 64% in the surgery-alone arm and 65% in the chemotherapy-plus-surgery arm (P = .22).
5. The previous four trials have been combined with the 14 first-generation trials in a trial-level meta-analysis.[47] Of the 18 randomized trials of patients with resectable soft tissue sarcomas, 5 trials used a combination of doxorubicin (50–90 mg/m^2^ per cycle) plus ifosfamide (1,500–5,000 mg/m^2^ per cycle). The remaining 13 trials used doxorubicin (50–70 mg/m^2^ per cycle) alone or with other drugs.[47][Level of evidence A1]
  - The absolute risk reduction in local recurrence rates associated with any chemotherapy added to local therapy was 4% (95% CI, 0%–7%), and it was 5% (95% CI, 1%–12%) when ifosfamide was combined with doxorubicin.
  - The absolute reduction in overall mortality was 6% with any chemotherapy (95% CI, 2%–11%; this was a reduction from 46% to 40%), 11% for doxorubicin plus ifosfamide (95% CI, 3%–19%; this was a reduction from 41% to 30%), and 5% for doxorubicin without ifosfamide.
6. An additional multicenter randomized trial (EORTC-62931 (https://www.cancer.gov/clinicaltrials/NCT00002641) [NCT00002641]) that used adjuvant doxorubicin (75 mg/m^2^) plus ifosfamide (5,000 mg/m^2^) was not included in the previous meta-analysis.[48] After local therapy, 351 patients were randomly assigned to five 21-day cycles of adjuvant therapy versus observation. The results of EORTC-62931 (https://www.cancer.gov/clinicaltrials/NCT00002641) differed from those reported in the previous meta-analysis.[47]
  - The OS rate did not differ significantly between groups (HR, 0.94; 95% CI, 0.68–1.31; P = .72); neither did the RFS rate (HR, 0.91, 0.67–1.22; P = .51).
  - The 5-year OS rates were 66.5% (95% CI, 58.8%–73%) in the chemotherapy group and 67.8% (95% CI, 60.3%–74.2%) in the control group.
7. In a subsequent analysis of pooled individual patient data, the EORTC investigators combined data from this trial (EORTC-62931 (https://www.cancer.gov/clinicaltrials/NCT00002641)) with data from their previous trial (EORTC-62771 (http://www.eortc.org/research_field/clinical-detail/62771/)) [49] of adjuvant cyclophosphamide plus doxorubicin plus dacarbazine (CYVADIC), representing the two largest trials of adjuvant therapy for adults with soft tissue sarcoma in the literature (N = 819 patients).[50] [Level of evidence A1];[51]
  - Large tumor size, high histological grade, and R1 resection emerged as independent adverse prognostic factors for RFS and OS.
  - Adjuvant chemotherapy was an independent favorable prognostic factor for RFS but not for OS.
  - Males and patients older than 40 years had a significantly better RFS in the treatment arms, while adjuvant chemotherapy was associated with a marginally worse OS in females and patients younger than 40 years.
  - The combined analysis showed no improvement in either RFS or OS associated with adjuvant chemotherapy.

In summary, the impact of adjuvant chemotherapy on survival is still controversial but is likely to be small in absolute magnitude.

#### Neoadjuvant chemotherapy

In prospective studies, neoadjuvant chemotherapy with or without radiation therapy has shown response rates of 17% to 32%, 10-year RFS rates of up to 58%, and 10-year OS rates of up to 64%.[46,52-56]

In retrospective studies, neoadjuvant chemotherapy with or without radiation therapy has resulted in DFS rates of 80% to 90% compared with about 60% in historical controls.[57-59]

A combined analysis of the RTOG-9514 (https://www.cancer.gov/clinicaltrials/NCT00002791) study (NCT00002791) of neoadjuvant chemoradiation and the RTOG-0630 (https://www.cancer.gov/clinicaltrials/NCT00589121) study (NCT00589121) of neoadjuvant radiation therapy showed rates of pathological complete response of 27.5% in patients on neoadjuvant chemoradiation and 19.4% in patients on neoadjuvant radiation therapy in 123 evaluable patients. At a median follow-up of more than 5 years, the OS rate was 100% in patients with pathological complete responses; 5-year survival rates were 76.5% (RTOG-9514) and 56.4% (RTOG-0630) for patients who did not achieve pathological complete responses.[60]

Evidence (neoadjuvant histotype-tailored chemotherapy vs. standard chemotherapy):

1. The phase III ISG-STS1001 (https://www.cancer.gov/clinicaltrials/NCT01710176) study (NCT01710176) enrolled 164 patients with high-risk features (grade 3 tumor or grade 2 tumor with more than 50% necrosis, size ≥5 cm, deep location).[56] Patients were randomly assigned to receive either standard chemotherapy or histotype-tailored chemotherapy for three cycles as listed below:
  a. Standard chemotherapy (every 21 days):
    - Epirubicin, 60 mg/m^2^, on days 1 and 2 plus ifosfamide, 3 g/m^2^, on days 1, 2, and 3.
  b. Histotype-tailored chemotherapy:
    - Undifferentiated pleomorphic sarcoma: docetaxel, 75 mg/m^2^, on day 8 plus gemcitabine, 900 mg/m^2^, on days 1 and 8 (every 21 days).
    - Myxoid liposarcoma: trabectedin, 1.3 mg/m^2^, continuous infusion (every 21 days).
    - Synovial sarcoma: ifosfamide, 14 g/m^2^, 14 days of continuous infusion (every 28 days).
    - Malignant peripheral nerve sheath tumor: ifosfamide, 3 g/m^2^, on days 1, 2, and 3 plus etoposide, 150 mg/m^2^, on days 1, 2, and 3 (every 21 days).
    - Leiomyosarcoma: gemcitabine, 1,800 mg/m^2^, on day 1 plus dacarbazine, 500 mg/m^2^, on day 1 (every 14 days).
  The following results were reported:
  - With a median follow-up of 12.3 months, the projected RFS rate at 46 months was 62% (95% CI, 48%–77%) for patients who received standard chemotherapy versus 38% (95% CI, 22%–P = .004).
  - The OS rate was 89% (95% CI, 78%–99%) in the standard chemotherapy group versus 64% (95% CI, 27%–100%) in the histotype-tailored chemotherapy group (P = .034).
  - Trabectedin for myxoid liposarcoma had outcomes similar to those for the standard chemotherapy group.[56]

#### Chemotherapy for advanced disease

Anthracyclines remain the first-line class of systemic therapy in managing most locally advanced and metastatic soft tissue sarcoma.[61]

Other regimens, approved for use as second-line therapy and beyond, include:

- Gemcitabine/docetaxel.[62]
- Ifosfamide.
- Trabectedin (liposarcoma and leiomyosarcoma).[63]
- Eribulin (liposarcoma).[64]
- Pazopanib.[65]
- Dacarbazine.
- Pegylated liposomal (encapsulated) doxorubicin.[66]

Taxanes or taxane combinations are used for patients with angiosarcomas.

The clinical benefit of adding other drugs to the single-agent doxorubicin regimen is controversial.

In randomized studies, the combination of doxorubicin with ifosfamide has not demonstrated superiority over doxorubicin alone in terms of OS, but adding ifosfamide to doxorubicin may be considered in cases where reaching a better response to treatment, despite more toxicity, is the main treatment goal.[52,67]

### References

Gustafson P, Dreinhöfer KE, Rydholm A: Soft tissue sarcoma should be treated at a tumor center. A comparison of quality of surgery in 375 patients. Acta Orthop Scand 65 (1): 47-50, 1994.8154283
Bhangu AA, Beard JA, Grimer RJ: Should Soft Tissue Sarcomas be Treated at a Specialist Centre? Sarcoma 8 (1): 1-6, 2004.18521386
Pisters PW, Pollock RE, Lewis VO, et al.: Long-term results of prospective trial of surgery alone with selective use of radiation for patients with T1 extremity and trunk soft tissue sarcomas. Ann Surg 246 (4): 675-81; discussion 681-2, 2007.17893504
Fabrizio PL, Stafford SL, Pritchard DJ: Extremity soft-tissue sarcomas selectively treated with surgery alone. Int J Radiat Oncol Biol Phys 48 (1): 227-32, 2000.10924993
Rydholm A, Gustafson P, Rööser B, et al.: Limb-sparing surgery without radiotherapy based on anatomic location of soft tissue sarcoma. J Clin Oncol 9 (10): 1757-65, 1991.1919628
Al-Refaie WB, Habermann EB, Jensen EH, et al.: Surgery alone is adequate treatment for early stage soft tissue sarcoma of the extremity. Br J Surg 97 (5): 707-13, 2010.20235085
Rydholm A: Surgery without radiotherapy in soft tissue sarcoma. Acta Orthop Scand Suppl 273: 117-9, 1997.9057600
Lohman RF, Nabawi AS, Reece GP, et al.: Soft tissue sarcoma of the upper extremity: a 5-year experience at two institutions emphasizing the role of soft tissue flap reconstruction. Cancer 94 (8): 2256-64, 2002.12001125 22020821
Ramey SJ, Yechieli R, Zhao W, et al.: Limb-sparing surgery plus radiotherapy results in superior survival: an analysis of patients with high-grade, extremity soft-tissue sarcoma from the NCDB and SEER. Cancer Med 7 (9): 4228-4239, 2018.30030882
Williard WC, Hajdu SI, Casper ES, et al.: Comparison of amputation with limb-sparing operations for adult soft tissue sarcoma of the extremity. Ann Surg 215 (3): 269-75, 1992.1543400
Müller DA, Beltrami G, Scoccianti G, et al.: Combining limb-sparing surgery with radiation therapy in high-grade soft tissue sarcoma of extremities - Is it effective? Eur J Surg Oncol 42 (7): 1057-63, 2016.26924784
O'Byrne K, Steward WP: The role of adjuvant chemotherapy in the treatment of adult soft tissue sarcomas. Crit Rev Oncol Hematol 27 (3): 221-7, 1998.9649934 98313620
Singer S, Antonescu CR: Molecular biology of sarcomas. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1384-99.
Singer S, Tap WD, Kirsch DG: Soft tissue sarcoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1400-49.
O’Donnell RJ, DuBois SG, Haas-Kogan DA: Sarcomas of bone. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1450-74.
Lewis JJ, Leung D, Woodruff JM, et al.: Retroperitoneal soft-tissue sarcoma: analysis of 500 patients treated and followed at a single institution. Ann Surg 228 (3): 355-65, 1998.9742918 98413850
Stojadinovic A, Yeh A, Brennan MF: Completely resected recurrent soft tissue sarcoma: primary anatomic site governs outcomes. J Am Coll Surg 194 (4): 436-47, 2002.11949749
Bonvalot S, Rivoire M, Castaing M, et al.: Primary retroperitoneal sarcomas: a multivariate analysis of surgical factors associated with local control. J Clin Oncol 27 (1): 31-7, 2009.19047280
Gronchi A, Miceli R, Colombo C, et al.: Frontline extended surgery is associated with improved survival in retroperitoneal low- to intermediate-grade soft tissue sarcomas. Ann Oncol 23 (4): 1067-73, 2012.21765179
Bonvalot S, Miceli R, Berselli M, et al.: Aggressive surgery in retroperitoneal soft tissue sarcoma carried out at high-volume centers is safe and is associated with improved local control. Ann Surg Oncol 17 (6): 1507-14, 2010.20393803
Gronchi A, Miceli R, Allard MA, et al.: Personalizing the approach to retroperitoneal soft tissue sarcoma: histology-specific patterns of failure and postrelapse outcome after primary extended resection. Ann Surg Oncol 22 (5): 1447-54, 2015.25300609
Callegaro D, Fiore M, Gronchi A: Personalizing surgical margins in retroperitoneal sarcomas. Expert Rev Anticancer Ther 15 (5): 553-67, 2015.25797538
Gronchi A, Lo Vullo S, Fiore M, et al.: Aggressive surgical policies in a retrospectively reviewed single-institution case series of retroperitoneal soft tissue sarcoma patients. J Clin Oncol 27 (1): 24-30, 2009.19047283
van Geel AN, Pastorino U, Jauch KW, et al.: Surgical treatment of lung metastases: The European Organization for Research and Treatment of Cancer-Soft Tissue and Bone Sarcoma Group study of 255 patients. Cancer 77 (4): 675-82, 1996.8616759 96186851
Casson AG, Putnam JB, Natarajan G, et al.: Five-year survival after pulmonary metastasectomy for adult soft tissue sarcoma. Cancer 69 (3): 662-8, 1992.1730117 92110719
Putnam JB, Roth JA: Surgical treatment for pulmonary metastases from sarcoma. Hematol Oncol Clin North Am 9 (4): 869-87, 1995.7490246 96015099
Bagaria SP, Ashman JB, Daugherty LC, et al.: Compliance with National Comprehensive Cancer Network guidelines in the use of radiation therapy for extremity and superficial trunk soft tissue sarcoma in the United States. J Surg Oncol 109 (7): 633-8, 2014.24464402
Kepka L, DeLaney TF, Suit HD, et al.: Results of radiation therapy for unresected soft-tissue sarcomas. Int J Radiat Oncol Biol Phys 63 (3): 852-9, 2005.16199316
Yang JC, Chang AE, Baker AR, et al.: Randomized prospective study of the benefit of adjuvant radiation therapy in the treatment of soft tissue sarcomas of the extremity. J Clin Oncol 16 (1): 197-203, 1998.9440743 98101693
O'Sullivan B, Davis AM, Turcotte R, et al.: Preoperative versus postoperative radiotherapy in soft-tissue sarcoma of the limbs: a randomised trial. Lancet 359 (9325): 2235-41, 2002.12103287 22100115
O'Sullivan B, Davis A, Turcotte R, et al.: Five-year results of a randomized phase III trial of pre-operative vs post-operative radiotherapy in extremity soft tissue sarcoma. [Abstract] J Clin Oncol 22 (Suppl 14): A-9007, 819s, 2004.
Davis AM, O'Sullivan B, Turcotte R, et al.: Late radiation morbidity following randomization to preoperative versus postoperative radiotherapy in extremity soft tissue sarcoma. Radiother Oncol 75 (1): 48-53, 2005.15948265
Pisters PW, Harrison LB, Leung DH, et al.: Long-term results of a prospective randomized trial of adjuvant brachytherapy in soft tissue sarcoma. J Clin Oncol 14 (3): 859-68, 1996.8622034
Alektiar KM, Zelefsky MJ, Brennan MF: Morbidity of adjuvant brachytherapy in soft tissue sarcoma of the extremity and superficial trunk. Int J Radiat Oncol Biol Phys 47 (5): 1273-9, 2000.10889381
Alektiar KM, Brennan MF, Healey JH, et al.: Impact of intensity-modulated radiation therapy on local control in primary soft-tissue sarcoma of the extremity. J Clin Oncol 26 (20): 3440-4, 2008.18612160
Alektiar KM, Brennan MF, Singer S: Local control comparison of adjuvant brachytherapy to intensity-modulated radiotherapy in primary high-grade sarcoma of the extremity. Cancer 117 (14): 3229-34, 2011.21264834
Folkert MR, Singer S, Brennan MF, et al.: Comparison of local recurrence with conventional and intensity-modulated radiation therapy for primary soft-tissue sarcomas of the extremity. J Clin Oncol 32 (29): 3236-41, 2014.25185087
Nussbaum DP, Rushing CN, Lane WO, et al.: Preoperative or postoperative radiotherapy versus surgery alone for retroperitoneal sarcoma: a case-control, propensity score-matched analysis of a nationwide clinical oncology database. Lancet Oncol 17 (7): 966-975, 2016.27210906
Pawlik TM, Pisters PW, Mikula L, et al.: Long-term results of two prospective trials of preoperative external beam radiotherapy for localized intermediate- or high-grade retroperitoneal soft tissue sarcoma. Ann Surg Oncol 13 (4): 508-17, 2006.16491338
Adjuvant chemotherapy for localised resectable soft-tissue sarcoma of adults: meta-analysis of individual data. Sarcoma Meta-analysis Collaboration. Lancet 350 (9092): 1647-54, 1997.9400508 98063155
Sarcoma Meta-analysis Collaboration (SMAC): Adjuvant chemotherapy for localised resectable soft tissue sarcoma in adults. Cochrane Database Syst Rev (4): CD001419, 2000.11034717
Brodowicz T, Schwameis E, Widder J, et al.: Intensified Adjuvant IFADIC Chemotherapy for Adult Soft Tissue Sarcoma: A Prospective Randomized Feasibility Trial. Sarcoma 4 (4): 151-60, 2000.18521295
Frustaci S, Gherlinzoni F, De Paoli A, et al.: Adjuvant chemotherapy for adult soft tissue sarcomas of the extremities and girdles: results of the Italian randomized cooperative trial. J Clin Oncol 19 (5): 1238-47, 2001.11230464 21142850
Frustaci S, De Paoli A, Bidoli E, et al.: Ifosfamide in the adjuvant therapy of soft tissue sarcomas. Oncology 65 (Suppl 2): 80-4, 2003.14586155
Petrioli R, Coratti A, Correale P, et al.: Adjuvant epirubicin with or without Ifosfamide for adult soft-tissue sarcoma. Am J Clin Oncol 25 (5): 468-73, 2002.12393986
Gortzak E, Azzarelli A, Buesa J, et al.: A randomised phase II study on neo-adjuvant chemotherapy for 'high-risk' adult soft-tissue sarcoma. Eur J Cancer 37 (9): 1096-103, 2001.11378339 21272299
Pervaiz N, Colterjohn N, Farrokhyar F, et al.: A systematic meta-analysis of randomized controlled trials of adjuvant chemotherapy for localized resectable soft-tissue sarcoma. Cancer 113 (3): 573-81, 2008.18521899
Woll PJ, Reichardt P, Le Cesne A, et al.: Adjuvant chemotherapy with doxorubicin, ifosfamide, and lenograstim for resected soft-tissue sarcoma (EORTC 62931): a multicentre randomised controlled trial. Lancet Oncol 13 (10): 1045-54, 2012.22954508
Bramwell V, Rouesse J, Steward W, et al.: Adjuvant CYVADIC chemotherapy for adult soft tissue sarcoma--reduced local recurrence but no improvement in survival: a study of the European Organization for Research and Treatment of Cancer Soft Tissue and Bone Sarcoma Group. J Clin Oncol 12 (6): 1137-49, 1994.8201375
Le Cesne A, Van Glabbeke M, Woll PJ, et al.: The end of adjuvant chemotherapy (adCT) era with doxorubicin-based regimen in resected high-grade soft tissue sarcoma (STS): pooled analysis of the two STBSG-EORTC phase III clinical trials. [Abstract] J Clin Oncol 26 (Suppl 15): A-10525, 2008.
Le Cesne A, Ouali M, Leahy MG, et al.: Doxorubicin-based adjuvant chemotherapy in soft tissue sarcoma: pooled analysis of two STBSG-EORTC phase III clinical trials. Ann Oncol 25 (12): 2425-32, 2014.25294887
Antman K, Crowley J, Balcerzak SP, et al.: An intergroup phase III randomized study of doxorubicin and dacarbazine with or without ifosfamide and mesna in advanced soft tissue and bone sarcomas. J Clin Oncol 11 (7): 1276-85, 1993.8315425 93301661
DeLaney TF, Spiro IJ, Suit HD, et al.: Neoadjuvant chemotherapy and radiotherapy for large extremity soft-tissue sarcomas. Int J Radiat Oncol Biol Phys 56 (4): 1117-27, 2003.12829150
Kraybill WG, Harris J, Spiro IJ, et al.: Phase II study of neoadjuvant chemotherapy and radiation therapy in the management of high-risk, high-grade, soft tissue sarcomas of the extremities and body wall: Radiation Therapy Oncology Group Trial 9514. J Clin Oncol 24 (4): 619-25, 2006.16446334
Gronchi A, Stacchiotti S, Verderio P, et al.: Short, full-dose adjuvant chemotherapy (CT) in high-risk adult soft tissue sarcomas (STS): long-term follow-up of a randomized clinical trial from the Italian Sarcoma Group and the Spanish Sarcoma Group. Ann Oncol 27 (12): 2283-2288, 2016.27733375
Gronchi A, Ferrari S, Quagliuolo V, et al.: Histotype-tailored neoadjuvant chemotherapy versus standard chemotherapy in patients with high-risk soft-tissue sarcomas (ISG-STS 1001): an international, open-label, randomised, controlled, phase 3, multicentre trial. Lancet Oncol 18 (6): 812-822, 2017.28499583
Pezzi CM, Pollock RE, Evans HL, et al.: Preoperative chemotherapy for soft-tissue sarcomas of the extremities. Ann Surg 211 (4): 476-81, 1990.2157378
Spiro IJ, Rosenberg AE, Springfield D, et al.: Combined surgery and radiation therapy for limb preservation in soft tissue sarcoma of the extremity: the Massachusetts General Hospital experience. Cancer Invest 13 (1): 86-95, 1995.7834478
Grobmyer SR, Maki RG, Demetri GD, et al.: Neo-adjuvant chemotherapy for primary high-grade extremity soft tissue sarcoma. Ann Oncol 15 (11): 1667-72, 2004.15520069
Wang D, Harris J, Kraybill WG, et al.: Pathologic complete response and survival outcomes in patients with localized soft tissue sarcoma treated with neoadjuvant chemoradiotherapy or radiotherapy: Long-term update of NRG Oncology RTOG 9514 and 0630. [Abstract] J Clin Oncol 35 (Suppl 15): A-11012, 2017. Also available online (http://ascopubs.org/doi/abs/10.1200/JCO.2017.35.15_suppl.11012). Last accessed February 21, 2025.
Bramwell VH, Anderson D, Charette ML, et al.: Doxorubicin-based chemotherapy for the palliative treatment of adult patients with locally advanced or metastatic soft tissue sarcoma. Cochrane Database Syst Rev (3): CD003293, 2003.12917960
Hensley ML, Maki R, Venkatraman E, et al.: Gemcitabine and docetaxel in patients with unresectable leiomyosarcoma: results of a phase II trial. J Clin Oncol 20 (12): 2824-31, 2002.12065559 22060840
Demetri GD, von Mehren M, Jones RL, et al.: Efficacy and Safety of Trabectedin or Dacarbazine for Metastatic Liposarcoma or Leiomyosarcoma After Failure of Conventional Chemotherapy: Results of a Phase III Randomized Multicenter Clinical Trial. J Clin Oncol 34 (8): 786-93, 2016.26371143
Schöffski P, Chawla S, Maki RG, et al.: Eribulin versus dacarbazine in previously treated patients with advanced liposarcoma or leiomyosarcoma: a randomised, open-label, multicentre, phase 3 trial. Lancet 387 (10028): 1629-37, 2016.26874885
van der Graaf WT, Blay JY, Chawla SP, et al.: Pazopanib for metastatic soft-tissue sarcoma (PALETTE): a randomised, double-blind, placebo-controlled phase 3 trial. Lancet 379 (9829): 1879-86, 2012.22595799
Judson I, Radford JA, Harris M, et al.: Randomised phase II trial of pegylated liposomal doxorubicin (DOXIL/CAELYX) versus doxorubicin in the treatment of advanced or metastatic soft tissue sarcoma: a study by the EORTC Soft Tissue and Bone Sarcoma Group. Eur J Cancer 37 (7): 870-7, 2001.11313175 21213675
Edmonson JH, Ryan LM, Blum RH, et al.: Randomized comparison of doxorubicin alone versus ifosfamide plus doxorubicin or mitomycin, doxorubicin, and cisplatin against advanced soft tissue sarcomas. J Clin Oncol 11 (7): 1269-75, 1993.8315424 93301660

## Treatment of Stage I Soft Tissue Sarcoma

### Treatment Options for Stage I Soft Tissue Sarcoma

Treatment options for stage I soft tissue sarcoma include:

1. Surgery.
2. Surgery with radiation therapy.
3. High-dose radiation therapy.

For more information on surgery and radiation therapy, see the Treatment Option Overview for Soft Tissue Sarcoma section.

Because of the low metastatic potential of these tumors, chemotherapy is usually not given to patients with stage I soft tissue sarcoma.[1,2]

#### Surgery

Low-grade soft tissue sarcomas have little metastatic potential, but they have a tendency to recur locally. The treatment of choice for patients with early-stage sarcomas (tumors ≤5 cm in diameters) is surgical excision with negative tissue margins (of 1 cm to 2 cm or larger) in all directions.[3-10]

The Mohs surgical technique may be considered as an alternative to wide surgical excision for very rare, small, well-differentiated primary sarcomas of the skin when cosmetic results are important, as margins can be assured with minimal normal tissue removal.[11]

#### Surgery with radiation therapy

Surgical excision with preoperative radiation therapy (preRT) or postoperative radiation therapy (PORT) may be indicated. Radiation therapy decreases the risk of local recurrence but has not been shown to increase overall survival.[12-14]

Options for tumors of the retroperitoneum, trunk, and head and neck include:

- Surgical resection with the option of PORT if negative margins cannot be obtained. Wide margins are unusual in these sites, and radiation therapy is usually advocated for trunk and head and neck primary tumor sites.[15]
- PreRT followed by maximal surgical resection. Radiation therapy may be used in sarcomas of the trunk and head and neck to maximize local control when wide surgical margins cannot be obtained.[16]

#### High-dose radiation therapy

For unresectable tumors, higher doses of radiation therapy with curative intent may be used.[17] Carefully executed high-dose radiation therapy using a shrinking-field technique may be beneficial in the following cases:[18]

- Unresectable tumors.
- Resectable tumors with inadequate margins and a high likelihood of residual disease.
- A wide resection requires an amputation or the removal of a vital organ.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Sarcoma Meta-analysis Collaboration (SMAC): Adjuvant chemotherapy for localised resectable soft tissue sarcoma in adults. Cochrane Database Syst Rev (4): CD001419, 2000.11034717
Pervaiz N, Colterjohn N, Farrokhyar F, et al.: A systematic meta-analysis of randomized controlled trials of adjuvant chemotherapy for localized resectable soft-tissue sarcoma. Cancer 113 (3): 573-81, 2008.18521899
Singer S, Antonescu CR: Molecular biology of sarcomas. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1384-99.
Singer S, Tap WD, Kirsch DG: Soft tissue sarcoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1400-49.
O’Donnell RJ, DuBois SG, Haas-Kogan DA: Sarcomas of bone. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1450-74.
Al-Refaie WB, Habermann EB, Jensen EH, et al.: Surgery alone is adequate treatment for early stage soft tissue sarcoma of the extremity. Br J Surg 97 (5): 707-13, 2010.20235085
Pisters PW, Pollock RE, Lewis VO, et al.: Long-term results of prospective trial of surgery alone with selective use of radiation for patients with T1 extremity and trunk soft tissue sarcomas. Ann Surg 246 (4): 675-81; discussion 681-2, 2007.17893504
Fabrizio PL, Stafford SL, Pritchard DJ: Extremity soft-tissue sarcomas selectively treated with surgery alone. Int J Radiat Oncol Biol Phys 48 (1): 227-32, 2000.10924993
Rydholm A, Gustafson P, Rööser B, et al.: Limb-sparing surgery without radiotherapy based on anatomic location of soft tissue sarcoma. J Clin Oncol 9 (10): 1757-65, 1991.1919628
Rydholm A: Surgery without radiotherapy in soft tissue sarcoma. Acta Orthop Scand Suppl 273: 117-9, 1997.9057600
Fish FS: Soft tissue sarcomas in dermatology. Dermatol Surg 22 (3): 268-73, 1996.8599739 96178090
Yang JC, Chang AE, Baker AR, et al.: Randomized prospective study of the benefit of adjuvant radiation therapy in the treatment of soft tissue sarcomas of the extremity. J Clin Oncol 16 (1): 197-203, 1998.9440743 98101693
O'Sullivan B, Davis AM, Turcotte R, et al.: Preoperative versus postoperative radiotherapy in soft-tissue sarcoma of the limbs: a randomised trial. Lancet 359 (9325): 2235-41, 2002.12103287 22100115
Davis AM, O'Sullivan B, Turcotte R, et al.: Late radiation morbidity following randomization to preoperative versus postoperative radiotherapy in extremity soft tissue sarcoma. Radiother Oncol 75 (1): 48-53, 2005.15948265
Singer S, Maki RG, O'Sullivan B: Soft tissue sarcoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 1533-77.
Baldini EH, Wang D, Haas RL, et al.: Treatment Guidelines for Preoperative Radiation Therapy for Retroperitoneal Sarcoma: Preliminary Consensus of an International Expert Panel. Int J Radiat Oncol Biol Phys 92 (3): 602-12, 2015.26068493
Kepka L, DeLaney TF, Suit HD, et al.: Results of radiation therapy for unresected soft-tissue sarcomas. Int J Radiat Oncol Biol Phys 63 (3): 852-9, 2005.16199316
Temple WJ, Temple CL, Arthur K, et al.: Prospective cohort study of neoadjuvant treatment in conservative surgery of soft tissue sarcomas. Ann Surg Oncol 4 (7): 586-90, 1997 Oct-Nov.9367026 98033895

## Treatment of Stage II and Node-Negative Stage III Soft Tissue Sarcoma

### Treatment Options for Stage II and Node-Negative Stage III Soft Tissue Sarcoma

Treatment options for stage II and node-negative stage III soft tissue sarcoma include:

1. Surgery.
2. Surgery with radiation therapy.
3. Radiation therapy and/or chemotherapy followed by surgery.
4. High-dose radiation therapy.

For more information on surgery, radiation therapy, and chemotherapy, see the Treatment Option Overview for Soft Tissue Sarcoma section.

#### Surgery

Complete surgical resection (removal of the entire gross tumor) is the most important factor in preventing local recurrence and, in many instances, requires resection of adjacent viscera. Surgical excision with negative tissue margins in all directions is generally restricted to low-grade tumors of the extremities (≤5 cm in diameter) or superficial trunk tumors with microscopically negative surgical margins.[1-5]

Complete surgical resection of retroperitoneal sarcomas is often difficult because of their large size at detection and anatomical location.[6,7] Local recurrence is the most common cause of death in these patients.

#### Surgery with radiation therapy

High-grade localized soft tissue sarcomas have an increased potential for local recurrence and metastasis. For sarcomas of the extremities, local control comparable to that obtained with amputation may be achieved with limb-sparing surgery that involves wide local excision in combination with preoperative radiation therapy (preRT) or postoperative radiation therapy (PORT). Radiation decreases the risk of local recurrence but has not been shown to increase overall survival.[8-11]

A retrospective review that compared surgery with or without preRT for retroperitoneal sarcomas suggested that the addition of preRT was associated with improved local recurrence-free survival, but not disease-free survival.[12]

#### Radiation therapy and/or chemotherapy followed by surgery

In some situations, radiation therapy and/or chemotherapy may be used before surgery to convert a marginally resectable tumor to one that can be adequately resected with limb preservation. This treatment may be followed by PORT.

#### High-dose radiation therapy

For unresectable tumors, high-dose radiation therapy may be used, but poor local control is likely to result.[13]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Al-Refaie WB, Habermann EB, Jensen EH, et al.: Surgery alone is adequate treatment for early stage soft tissue sarcoma of the extremity. Br J Surg 97 (5): 707-13, 2010.20235085
Pisters PW, Pollock RE, Lewis VO, et al.: Long-term results of prospective trial of surgery alone with selective use of radiation for patients with T1 extremity and trunk soft tissue sarcomas. Ann Surg 246 (4): 675-81; discussion 681-2, 2007.17893504
Fabrizio PL, Stafford SL, Pritchard DJ: Extremity soft-tissue sarcomas selectively treated with surgery alone. Int J Radiat Oncol Biol Phys 48 (1): 227-32, 2000.10924993
Rydholm A, Gustafson P, Rööser B, et al.: Limb-sparing surgery without radiotherapy based on anatomic location of soft tissue sarcoma. J Clin Oncol 9 (10): 1757-65, 1991.1919628
Rydholm A: Surgery without radiotherapy in soft tissue sarcoma. Acta Orthop Scand Suppl 273: 117-9, 1997.9057600
Heslin MJ, Lewis JJ, Nadler E, et al.: Prognostic factors associated with long-term survival for retroperitoneal sarcoma: implications for management. J Clin Oncol 15 (8): 2832-9, 1997.9256126 97398201
Jaques DP, Coit DG, Hajdu SI, et al.: Management of primary and recurrent soft-tissue sarcoma of the retroperitoneum. Ann Surg 212 (1): 51-9, 1990.2363604 90303033
Yang JC, Chang AE, Baker AR, et al.: Randomized prospective study of the benefit of adjuvant radiation therapy in the treatment of soft tissue sarcomas of the extremity. J Clin Oncol 16 (1): 197-203, 1998.9440743 98101693
Rosenberg SA, Tepper J, Glatstein E, et al.: The treatment of soft-tissue sarcomas of the extremities: prospective randomized evaluations of (1) limb-sparing surgery plus radiation therapy compared with amputation and (2) the role of adjuvant chemotherapy. Ann Surg 196 (3): 305-15, 1982.7114936
O'Sullivan B, Davis AM, Turcotte R, et al.: Preoperative versus postoperative radiotherapy in soft-tissue sarcoma of the limbs: a randomised trial. Lancet 359 (9325): 2235-41, 2002.12103287 22100115
Davis AM, O'Sullivan B, Turcotte R, et al.: Late radiation morbidity following randomization to preoperative versus postoperative radiotherapy in extremity soft tissue sarcoma. Radiother Oncol 75 (1): 48-53, 2005.15948265
Kelly KJ, Yoon SS, Kuk D, et al.: Comparison of Perioperative Radiation Therapy and Surgery Versus Surgery Alone in 204 Patients With Primary Retroperitoneal Sarcoma: A Retrospective 2-Institution Study. Ann Surg 262 (1): 156-62, 2015.26061213
Kepka L, DeLaney TF, Suit HD, et al.: Results of radiation therapy for unresected soft-tissue sarcomas. Int J Radiat Oncol Biol Phys 63 (3): 852-9, 2005.16199316

## Treatment of Advanced Stage III (N1) Soft Tissue Sarcoma

### Treatment Options for Advanced Stage III (N1) Soft Tissue Sarcoma

Treatment options for advanced stage III (N1) soft tissue sarcoma include:

1. Surgery and lymphadenectomy.
2. Surgery with neoadjuvant or adjuvant therapy.

For more information on surgery, radiation therapy, and chemotherapy, see the Treatment Option Overview for Soft Tissue Sarcoma section.

#### Surgery and lymphadenectomy

Regional lymph node involvement by soft tissue sarcomas in adults is rare but may occur in some sarcoma types. The sarcoma types that more commonly spread to lymph nodes include:[1]

- High-grade rhabdomyosarcoma.
- Vascular sarcomas.
- Synovial sarcoma.
- High-grade fibrosarcoma.
- Clear cell sarcoma.
- Epithelioid sarcomas.

Surgical resection and lymphadenectomy with or without postoperative radiation therapy may be indicated for patients with clinically positive lymph nodes.[1]

#### Surgery with neoadjuvant or adjuvant therapy

Neoadjuvant chemotherapy with or without radiation therapy or radiation therapy alone may be considered in selected cases where a limb-sparing surgery is advisable and/or there is a high probability of surgical resection with positive margins.[2-7]

Adjuvant chemotherapy may be considered but is not known to improve overall survival.[1,8-11] Clinical trials should be considered when available.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Mazeron JJ, Suit HD: Lymph nodes as sites of metastases from sarcomas of soft tissue. Cancer 60 (8): 1800-8, 1987.3308055
Antman K, Crowley J, Balcerzak SP, et al.: An intergroup phase III randomized study of doxorubicin and dacarbazine with or without ifosfamide and mesna in advanced soft tissue and bone sarcomas. J Clin Oncol 11 (7): 1276-85, 1993.8315425 93301661
Gortzak E, Azzarelli A, Buesa J, et al.: A randomised phase II study on neo-adjuvant chemotherapy for 'high-risk' adult soft-tissue sarcoma. Eur J Cancer 37 (9): 1096-103, 2001.11378339 21272299
DeLaney TF, Spiro IJ, Suit HD, et al.: Neoadjuvant chemotherapy and radiotherapy for large extremity soft-tissue sarcomas. Int J Radiat Oncol Biol Phys 56 (4): 1117-27, 2003.12829150
Kraybill WG, Harris J, Spiro IJ, et al.: Phase II study of neoadjuvant chemotherapy and radiation therapy in the management of high-risk, high-grade, soft tissue sarcomas of the extremities and body wall: Radiation Therapy Oncology Group Trial 9514. J Clin Oncol 24 (4): 619-25, 2006.16446334
Gronchi A, Stacchiotti S, Verderio P, et al.: Short, full-dose adjuvant chemotherapy (CT) in high-risk adult soft tissue sarcomas (STS): long-term follow-up of a randomized clinical trial from the Italian Sarcoma Group and the Spanish Sarcoma Group. Ann Oncol 27 (12): 2283-2288, 2016.27733375
Gronchi A, Ferrari S, Quagliuolo V, et al.: Histotype-tailored neoadjuvant chemotherapy versus standard chemotherapy in patients with high-risk soft-tissue sarcomas (ISG-STS 1001): an international, open-label, randomised, controlled, phase 3, multicentre trial. Lancet Oncol 18 (6): 812-822, 2017.28499583
Watson DI, Coventry BJ, Langlois SL, et al.: Soft-tissue sarcoma of the extremity. Experience with limb-sparing surgery. Med J Aust 160 (7): 412-6, 1994.8007863 94276911
Cormier JN, Huang X, Xing Y, et al.: Cohort analysis of patients with localized, high-risk, extremity soft tissue sarcoma treated at two cancer centers: chemotherapy-associated outcomes. J Clin Oncol 22 (22): 4567-74, 2004.15542808
O'Byrne K, Steward WP: The role of adjuvant chemotherapy in the treatment of adult soft tissue sarcomas. Crit Rev Oncol Hematol 27 (3): 221-7, 1998.9649934 98313620
Adjuvant chemotherapy for localised resectable soft-tissue sarcoma of adults: meta-analysis of individual data. Sarcoma Meta-analysis Collaboration. Lancet 350 (9092): 1647-54, 1997.9400508 98063155

## Treatment of Stage IV Soft Tissue Sarcoma

### Treatment Options for Stage IV Soft Tissue Sarcoma

Treatment options for stage IV soft tissue sarcoma include:

1. Chemotherapy.
2. Histology-specific targeted or immunotherapy treatment.
3. Surgery.

For more information on surgery and chemotherapy, see the Treatment Option Overview for Soft Tissue Sarcoma section.

#### Chemotherapy

Doxorubicin has been the standard systemic therapy in managing metastatic soft tissue sarcoma for several decades.[1-6] Other drugs that may have clinical activity as single agents or in combination with doxorubicin are ifosfamide, other anthracyclines (epirubicin, pegylated liposomal doxorubicin), gemcitabine, trabectedin, eribulin, pazopanib, dacarbazine, and taxanes.[4-10] Despite improved response rates with anthracycline combinations, toxicity is markedly higher without an improvement in overall survival (OS) for patients with soft tissue sarcoma, with the exception of some specific subtypes.[11-13] Thus, sequential use of single agents is the preferred strategy in most clinical settings.

A variety of other regimens have been used, but none have increased OS when compared with doxorubicin alone.[1,2]

There is some evidence that the addition of ifosfamide (with mesna) to doxorubicin increases response rates and progression-free survival (PFS), but it has not been shown to improve OS.[11] There is some evidence that the addition of trabectedin to doxorubicin improves PFS in patients with metastatic or unresectable leiomyosarcoma.[12,13]

Evidence (doxorubicin and ifosfamide vs. doxorubicin alone):

1. A randomized study (NCT00061984 (https://www.cancer.gov/clinicaltrials/NCT00061984)) assessed whether dose intensification of doxorubicin and ifosfamide improved the survival of patients with advanced soft tissue sarcoma compared with doxorubicin alone.[11][Level of evidence A1] In this study, patients were randomly assigned to receive doxorubicin (n = 228) or doxorubicin and ifosfamide (n = 227). The median follow-up was 56 months (interquartile range [IQR], 31–77 months) in the doxorubicin-only group and 59 months (IQR, 36–72 months) in the combination group.
  a. There was no significant difference in OS between groups: the median OS was 12.8 months (95.5% confidence interval [CI], 10.5–14.3) in the doxorubicin-alone group versus 14.3 months (range, 12.5–16.5) in the doxorubicin and ifosfamide group (hazard ratio [HR], 0.83; 95.5% CI, 0.67–1.03; stratified log-rank test P = .076).
  b. Median PFS was significantly higher for the doxorubicin and ifosfamide group (7.4 months; 95% CI, 6.6–8.3) than for the doxorubicin-alone group (4.6 months; range, 2.9–5.6 ) (HR, 0.74; 95% CI, 0.60–0.90; stratified log-rank test P = .003).
  c. More patients in the doxorubicin and ifosfamide group had an overall response (60 of 227 patients [26%]) than did patients in the doxorubicin-alone group (31 of 228 patients [14%]) (P < .0006).
  d. The most common grade 3 and 4 toxic effects were all more common with doxorubicin and ifosfamide (n = 224) than with doxorubicin alone (n = 223), and included leukopenia (43% vs. 18%), neutropenia (42% vs. 37%), febrile neutropenia (46% vs. 13%), anemia (35% vs. 5%), and thrombocytopenia (33% vs. <1%).

Evidence (doxorubicin and trabectedin vs. doxorubicin alone in leiomyosarcoma):

1. A randomized, open-label, phase III trial (LMS-04 (https://www.cancer.gov/clinicaltrials/NCT02997358) [NCT02997358]) evaluated the combination of doxorubicin and trabectedin compared with doxorubicin alone for treatment-naïve patients with metastatic and unresectable leiomyosarcoma. Patients were randomly assigned to receive either doxorubicin (at a 20% dose reduction, or 60 mg/m^2^) with trabectedin (at a 27% dose reduction, or 1.1 mg/m^2^) for up to six cycles, followed by maintenance trabectedin (at the same dose) or doxorubicin alone (at a standard dose of 75 mg/m^2^) for up to six cycles. Surgery was allowed in both arms for nonprogressive residual lesions after the completion of six cycles, if judged to be beneficial. A total of 150 patients were enrolled (67 with uterine leiomyosarcoma, 83 with soft tissue leiomyosarcoma); 74 patients received doxorubicin and trabectedin, and 76 patients received doxorubicin alone. The median follow-up was 55 months (IQR, 49–63 months).[13]
  a. The median OS was significantly higher in the doxorubicin-plus-trabectedin group (33 months), compared with the doxorubicin-alone group (24 months) (HR, 0.65; 95% CI, 0.44–0.95). The 24-month OS rate was 68% (95% CI, 57%–78%) in the combination group and 49% (95% CI, 38%–60%) in the doxorubicin-alone group.[13][Level of evidence A1]
  b. The median PFS was significantly higher in the doxorubicin-plus-trabectedin group (12 months), compared with the doxorubicin-alone group (6 months) (HR, 0.37; 95% CI, 0.26–0.53). The 24-month PFS rate was 30% (95% CI, 21%–42%) in the combination group and 3% (95% CI, 1%–9%) in the doxorubicin-alone group.[13][Level of evidence A1]
  c. There are some important caveats to consider:
    - Only patients in the doxorubicin-plus-trabectedin group without progression after six cycles were eligible to receive maintenance trabectedin. The median number of maintenance cycles of trabectedin received was 10.5. However, a total of 17 patients (23%) in the combination group did not receive maintenance therapy.
    - In the doxorubicin-alone group, 22% of patients had disease progression during the first six cycles. In the same group, 37% of patients received trabectedin as their second-line treatment, and 23% of patients received trabectedin as third-line therapy or beyond.
    - Surgery was performed in 20% of patients in the combination group and 8% of patients in the doxorubicin-alone group. This treatment could bias PFS and OS results.
  d. Grade 3 and 4 adverse events, including neutropenia, anemia, thrombocytopenia, and febrile neutropenia, were more common in the doxorubicin-plus-trabectedin group (97%) than in the doxorubicin-alone group (56%) (P < .001). In addition, grade 3 and 4 liver toxicity was more common in the combination group (46%), compared with the doxorubicin-alone group (3%).

The combination of gemcitabine and docetaxel is used as second-line therapy in treating patients with soft tissue sarcoma. In selected cases, this combination may also be considered as first-line therapy.[5,14] Toxicity is increased with the use of combination chemotherapy. However, no quality-of-life studies have compared the use of single-agent therapy with combination therapy.

Evidence (gemcitabine and docetaxel vs. gemcitabine alone):

1. A randomized phase II study of 122 patients with soft tissue sarcoma reported the following results:[5][Level of evidence B3]
  - The objective response rate was 16% in the gemcitabine and docetaxel group versus 8% in the gemcitabine-alone group.
  - Median PFS was 6.2 months in the gemcitabine and docetaxel group versus 3.0 months in the gemcitabine-alone group.
  - Median OS was 17.9 months in the gemcitabine and docetaxel group versus 11.5 months in the gemcitabine-alone group.
2. In a retrospective series of 133 patients, gemcitabine and docetaxel showed activity in patients with leiomyosarcoma as well as other histologies with an overall response rate of 18.4%.[15]

Evidence (gemcitabine and docetaxel vs. doxorubicin alone):

1. The GeDDis trial (ISRCTN07742377 (http://www.isrctn.com/ISRCTN07742377)) randomly assigned 257 previously untreated patients to receive either gemcitabine and docetaxel or doxorubicin alone.[14]
  - The PFS rate at 24 weeks (46% in both groups) and the primary end point (median PFS, 23.3 weeks vs. 23.7 weeks) were identical in both groups.
  - This study may have been limited by the relatively low dose of gemcitabine used (675 mg/m^2^ on days 1 and 8 instead of 900 mg/m^2^ as in previous trials).

#### Histology-specific targeted or immunotherapy treatment

Although doxorubicin alone has traditionally been considered the standard when comparing new drugs or regimens in the context of phase III clinical trials, some sarcoma subtypes have shown higher sensitivity to specific agents. Table 9 provides examples of specific agents that can be used as frontline treatment for specific subtypes.

Table 9. Sarcoma Subtypes With Higher Sensitivity to Specific Agents

Sarcoma Subtype | Specific Agent
Alveolar soft-part sarcoma | TKIs, including sunitinib [16] and pazopanib [17]
Alveolar soft-part sarcoma | Immunotherapy, including atezolizumab [18] and pembrolizumab [19]
Angiosarcoma | Taxanes [20]
Dermatofibrosarcoma protuberans | Imatinib [21,22]
Inflammatory myofibroblastic tumor | ALK inhibitors [23]
PEComa | mTOR inhibitors [24], including nab-sirolimus [25]
NTRK-fusion-associated sarcomas | Larotrectinib [26]
Epithelioid sarcoma | Tazemetostat [27]
Desmoid tumors | Gamma secretase inhibitors, including nirogacestat [28]
Desmoid tumors | TKIs, including sorafenib [29]

ALK = anaplastic lymphoma kinase; mTOR = mammalian target of rapamycin; PEComa = perivascular epithelioid cell tumor; TKI = tyrosine kinase inhibitor.

##### Treatment of desmoid tumors

Evidence (nirogacestat vs. placebo):

1. A phase III placebo-controlled trial (NCT03785964 (https://www.cancer.gov/clinicaltrials/NCT03785964)) included adults with progressing desmoid tumors who had either not received prior therapy or whose disease was refractory to prior therapy. Patients were stratified according to tumor location (intra-abdominal vs. extra-abdominal). Patients were randomly assigned to receive either oral nirogacestat (150 mg twice daily) or placebo (twice daily). A total of 142 patients were assigned (70 to the nirogacestat group and 72 to the placebo group) across 37 sites in the United States, Canada, and Europe. Thirty-seven patients in each group were women of childbearing potential. A total of 110 patients (77%) had previously undergone systemic therapy, radiation therapy, or surgery. The median follow-up was 15.9 months.[28]
  a. The median PFS could not be estimated in the nirogacestat group (due to a low number of events) and was 15.1 months in the placebo group. The risk of disease progression or death was 71% lower in the nirogacestat group (HR, 0.29; 95% CI, 0.15–0.55; P < .001).[28][Level of evidence B1]
  b. The objective response rate was 41% in the nirogacestat group and 8% in the placebo group (P < .001). Complete responses occurred in 7% of patients in the nirogacestat group and 0% of patients in the placebo group.
  c. Several patient-reported outcome measures were collected and assessed, including:
    - Brief Pain Inventory-Short Form.
    - GOunder/Desmoid Tumor Research Foundation DEsmoid Symptom/Impact Scale (GODDESS) (comprising the Desmoid Tumor Impact Scale physical functioning domain score and the Desmoid Tumor Symptom Scale).
    - European Organisation for Research and Treatment of Cancer Quality of Life Questionnaire (EORTC QLQ-C30) scales for global health status-quality of life, physical functioning, and role functioning.
    Compared with patients in the placebo group, patients in the nirogacestat group had significantly improved scores across all assessments (P < .001).
  d. Most (95%) adverse events were grade 1 or 2. The most common events (i.e., affecting >20% of patients) were diarrhea, nausea, fatigue, hypophosphatemia, maculopapular rash, stomatitis, headache, dermatitis acneiform, and vomiting.
  e. Ovarian dysfunction (defined as amenorrhea, premature menopause, menopause, and ovarian failure) occurred in 27 of 36 women (75%) of childbearing potential. Of these 27 women, 20 (74%) had resolution of their adverse event, 5 (19%) had unresolved ovarian dysfunction, and 2 (7%) had an unknown resolution status.

#### Surgery

If the primary tumor is under control, resection of metastatic lung tumors may be associated with long-term disease-free survival in patients with optimal underlying disease biology, such as a limited number of metastases and slow tumor growth.[30-32] It is not clear whether favorable outcomes are attributable to the efficacy of surgery or to patient selection bias.[30-32]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Bramwell VH, Anderson D, Charette ML, et al.: Doxorubicin-based chemotherapy for the palliative treatment of adult patients with locally advanced or metastatic soft tissue sarcoma. Cochrane Database Syst Rev (3): CD003293, 2003.12917960
Verma S, Younus J, Stys-Norman D, et al.: Meta-analysis of ifosfamide-based combination chemotherapy in advanced soft tissue sarcoma. Cancer Treat Rev 34 (4): 339-47, 2008.18313854
Grenader T, Goldberg A, Hadas-Halperin I, et al.: Long-term response to pegylated liposomal doxorubicin in patients with metastatic soft tissue sarcomas. Anticancer Drugs 20 (1): 15-20, 2009.19342997
Lorigan P, Verweij J, Papai Z, et al.: Phase III trial of two investigational schedules of ifosfamide compared with standard-dose doxorubicin in advanced or metastatic soft tissue sarcoma: a European Organisation for Research and Treatment of Cancer Soft Tissue and Bone Sarcoma Group Study. J Clin Oncol 25 (21): 3144-50, 2007.17634494
Maki RG, Wathen JK, Patel SR, et al.: Randomized phase II study of gemcitabine and docetaxel compared with gemcitabine alone in patients with metastatic soft tissue sarcomas: results of sarcoma alliance for research through collaboration study 002 [corrected]. J Clin Oncol 25 (19): 2755-63, 2007.17602081
Okuno S, Ryan LM, Edmonson JH, et al.: Phase II trial of gemcitabine in patients with advanced sarcomas (E1797): a trial of the Eastern Cooperative Oncology Group. Cancer 97 (8): 1969-73, 2003.12673725 22560145
Nielsen OS, Dombernowsky P, Mouridsen H, et al.: High-dose epirubicin is not an alternative to standard-dose doxorubicin in the treatment of advanced soft tissue sarcomas. A study of the EORTC soft tissue and bone sarcoma group. Br J Cancer 78 (12): 1634-9, 1998.9862576
van der Graaf WT, Blay JY, Chawla SP, et al.: Pazopanib for metastatic soft-tissue sarcoma (PALETTE): a randomised, double-blind, placebo-controlled phase 3 trial. Lancet 379 (9829): 1879-86, 2012.22595799
Demetri GD, von Mehren M, Jones RL, et al.: Efficacy and Safety of Trabectedin or Dacarbazine for Metastatic Liposarcoma or Leiomyosarcoma After Failure of Conventional Chemotherapy: Results of a Phase III Randomized Multicenter Clinical Trial. J Clin Oncol 34 (8): 786-93, 2016.26371143
Schöffski P, Chawla S, Maki RG, et al.: Eribulin versus dacarbazine in previously treated patients with advanced liposarcoma or leiomyosarcoma: a randomised, open-label, multicentre, phase 3 trial. Lancet 387 (10028): 1629-37, 2016.26874885
Judson I, Verweij J, Gelderblom H, et al.: Doxorubicin alone versus intensified doxorubicin plus ifosfamide for first-line treatment of advanced or metastatic soft-tissue sarcoma: a randomised controlled phase 3 trial. Lancet Oncol 15 (4): 415-23, 2014.24618336
Pautier P, Italiano A, Piperno-Neumann S, et al.: Doxorubicin alone versus doxorubicin with trabectedin followed by trabectedin alone as first-line therapy for metastatic or unresectable leiomyosarcoma (LMS-04): a randomised, multicentre, open-label phase 3 trial. Lancet Oncol 23 (8): 1044-1054, 2022.35835135
Pautier P, Italiano A, Piperno-Neumann S, et al.: Doxorubicin-Trabectedin with Trabectedin Maintenance in Leiomyosarcoma. N Engl J Med 391 (9): 789-799, 2024.39231341
Seddon B, Strauss SJ, Whelan J, et al.: Gemcitabine and docetaxel versus doxorubicin as first-line treatment in previously untreated advanced unresectable or metastatic soft-tissue sarcomas (GeDDiS): a randomised controlled phase 3 trial. Lancet Oncol 18 (10): 1397-1410, 2017.28882536
Bay JO, Ray-Coquard I, Fayette J, et al.: Docetaxel and gemcitabine combination in 133 advanced soft-tissue sarcomas: a retrospective analysis. Int J Cancer 119 (3): 706-11, 2006.16496406
Stacchiotti S, Negri T, Zaffaroni N, et al.: Sunitinib in advanced alveolar soft part sarcoma: evidence of a direct antitumor effect. Ann Oncol 22 (7): 1682-90, 2011.21242589
Stacchiotti S, Mir O, Le Cesne A, et al.: Activity of Pazopanib and Trabectedin in Advanced Alveolar Soft Part Sarcoma. Oncologist 23 (1): 62-70, 2018.28754721
Chen AP, Sharon E, O'Sullivan-Coyne G, et al.: Atezolizumab for Advanced Alveolar Soft Part Sarcoma. N Engl J Med 389 (10): 911-921, 2023.37672694
Wilky BA, Trucco MM, Subhawong TK, et al.: Axitinib plus pembrolizumab in patients with advanced sarcomas including alveolar soft-part sarcoma: a single-centre, single-arm, phase 2 trial. Lancet Oncol 20 (6): 837-848, 2019.31078463
Penel N, Bui BN, Bay JO, et al.: Phase II trial of weekly paclitaxel for unresectable angiosarcoma: the ANGIOTAX Study. J Clin Oncol 26 (32): 5269-74, 2008.18809609
Rutkowski P, Klimczak A, Ługowska I, et al.: Long-term results of treatment of advanced dermatofibrosarcoma protuberans (DFSP) with imatinib mesylate - The impact of fibrosarcomatous transformation. Eur J Surg Oncol 43 (6): 1134-1141, 2017.28365129
Stacchiotti S, Pantaleo MA, Negri T, et al.: Efficacy and Biological Activity of Imatinib in Metastatic Dermatofibrosarcoma Protuberans (DFSP). Clin Cancer Res 22 (4): 837-46, 2016.26261104
Butrynski JE, D'Adamo DR, Hornick JL, et al.: Crizotinib in ALK-rearranged inflammatory myofibroblastic tumor. N Engl J Med 363 (18): 1727-33, 2010.20979472
Wagner AJ, Malinowska-Kolodziej I, Morgan JA, et al.: Clinical activity of mTOR inhibition with sirolimus in malignant perivascular epithelioid cell tumors: targeting the pathogenic activation of mTORC1 in tumors. J Clin Oncol 28 (5): 835-40, 2010.20048174
Wagner AJ, Ravi V, Riedel RF, et al.: nab-Sirolimus for Patients With Malignant Perivascular Epithelioid Cell Tumors. J Clin Oncol 39 (33): 3660-3670, 2021.34637337
Laetsch TW, DuBois SG, Mascarenhas L, et al.: Larotrectinib for paediatric solid tumours harbouring NTRK gene fusions: phase 1 results from a multicentre, open-label, phase 1/2 study. Lancet Oncol 19 (5): 705-714, 2018.29606586
Gounder M, Schöffski P, Jones RL, et al.: Tazemetostat in advanced epithelioid sarcoma with loss of INI1/SMARCB1: an international, open-label, phase 2 basket study. Lancet Oncol 21 (11): 1423-1432, 2020.33035459
Gounder M, Ratan R, Alcindor T, et al.: Nirogacestat, a γ-Secretase Inhibitor for Desmoid Tumors. N Engl J Med 388 (10): 898-912, 2023.36884323
Gounder MM, Mahoney MR, Van Tine BA, et al.: Sorafenib for Advanced and Refractory Desmoid Tumors. N Engl J Med 379 (25): 2417-2428, 2018.30575484
van Geel AN, Pastorino U, Jauch KW, et al.: Surgical treatment of lung metastases: The European Organization for Research and Treatment of Cancer-Soft Tissue and Bone Sarcoma Group study of 255 patients. Cancer 77 (4): 675-82, 1996.8616759 96186851
Casson AG, Putnam JB, Natarajan G, et al.: Five-year survival after pulmonary metastasectomy for adult soft tissue sarcoma. Cancer 69 (3): 662-8, 1992.1730117 92110719
Putnam JB, Roth JA: Surgical treatment for pulmonary metastases from sarcoma. Hematol Oncol Clin North Am 9 (4): 869-87, 1995.7490246 96015099

## Treatment of Recurrent Soft Tissue Sarcoma

Treatment of patients with recurrent soft tissue sarcoma depends on the clinical presentation of the disease and previous treatment.

### Treatment Options for Recurrent Soft Tissue Sarcoma

Treatment options for recurrent soft tissue sarcoma include:

1. Surgery with or without radiation therapy.
2. Chemotherapy and targeted therapy.
  - Eribulin.
  - Trabectedin.
  - Pazopanib.
3. Immune checkpoint inhibitor therapy.

For more information on surgery, radiation therapy, and chemotherapy, see the Treatment Option Overview for Soft Tissue Sarcoma section.

#### Surgery with or without radiation therapy

Patients who develop a local recurrence can often be treated with local therapy, such as surgical excision plus radiation therapy (after previous minimal therapy) or amputation (after previous aggressive treatment).[1-7] Resection of limited pulmonary metastases may be associated with favorable disease-free survival.[8-10][Level of evidence C3] However, the contribution of selection factors, such as low tumor burden, slow tumor growth, and long disease-free interval, to these favorable outcomes is not known.

#### Chemotherapy and targeted therapy

Single-agent chemotherapy may be used with other single agents for disease recurrence.[11-16] Agents such as ifosfamide or gemcitabine may be used sequentially at the time of recurrence or progression.[13-15,17][Level of evidence C3] However, as none of these agents have been shown to increase overall survival (OS) in this setting, clinical trials are an appropriate option.

The U.S. Food and Drug Administration (FDA) has approved eribulin, trabectedin, and pazopanib for the treatment of soft tissue sarcomas after failure of a first-line chemotherapy regimen.

##### Eribulin

Eribulin is a microtubule inhibitor that the FDA approved in 2016 to treat patients with unresectable or metastatic liposarcoma, who previously received anthracycline-containing chemotherapy.

Evidence (eribulin):

1. The approval of eribulin was based on a phase III, multicenter, randomized study (NCT01327885 (https://www.cancer.gov/clinicaltrials/NCT01327885)) of 452 patients with advanced leiomyosarcoma or adipocytic sarcoma who received eribulin (1.4 mg/m^2^ intravenously [IV] on days 1 and 8 every 3 weeks) versus dacarbazine (850–1,200 mg/m^2^ IV on day 1 every 3 weeks).[18]
  - Although the median OS was 13.5 months for patients who received eribulin versus 11.5 months for patients who received dacarbazine (hazard ratio [HR]_death_, 0.77; 95% confidence interval [CI], 0.62–0.95), a preplanned subset analysis revealed a median survival of 15.6 months for eribulin versus 8.4 months for dacarbazine in patients with liposarcoma.
  - Median progression-free survival (PFS) was the same in both groups (2.6 months).

##### Trabectedin

Trabectedin is an FDA-approved option for second-line treatment of patients with advanced liposarcoma and leiomyosarcoma.

Evidence (trabectedin):

1. The approval of trabectedin was based on a phase III randomized study (NCT01343277 (https://www.cancer.gov/clinicaltrials/NCT01343277)) of 518 patients who received trabectedin (1.5 mg/m^2^ over 24 hours on day 1 every 21 days) or dacarbazine (1,000 mg/m^2^ on day 1 every 21 days).[19]
  - Treatment with trabectedin significantly improved median PFS (4.2 months for patients who received trabectedin vs. 1.5 months for patients who received dacarbazine).
  - OS, the primary end point, was not statistically different (12.4 months for patients who received trabectedin vs. 12.9 months for patients who received dacarbazine).
  - Response rates were low in both arms (10% for patients who received trabectedin vs. 7% for patients who received dacarbazine), but clinical benefit (that included both response rates and stable disease) was higher for the trabectedin group (34%) than for the dacarbazine group (19%).
  - The most common grade 3 and 4 adverse events in the trabectedin group were myelosuppression and transient elevation of liver function test results.

Phase II studies have shown a particularly high response rate to trabectedin in patients with myxoid/round cell liposarcoma, with overall response rates up to 51%, and a 6-month PFS rate of 88%.[20]

##### Pazopanib

Pazopanib is a multitargeted, oral, small molecule inhibitor of several tyrosine kinases, including vascular endothelial growth factor receptor-1, -2, and -3; platelet-derived growth factor receptor alpha and beta; and fibroblast growth factor receptor-1, and -3.

Evidence (pazopanib):

1. The phase III, randomized, double-blind PALETTE (https://www.cancer.gov/clinicaltrials/NCT00753688) study (NCT00753688) from the European Organisation for Research and Treatment of Cancer compared pazopanib (800 mg daily) with placebo in 369 patients with different soft tissue sarcoma subtypes, excluding adipocytic sarcomas and gastrointestinal stromal tumors. Patients were enrolled after disease progression on a first-line anthracycline-based regimen.[21]
  - The median PFS was 4.6 months for patients who received pazopanib versus 1.6 months for patients who received placebo.
  - The OS difference was not statistically significant. OS was 12.5 months for patients who received pazopanib versus 10.7 months for patients who received placebo (HR, 0.86; 95% CI, 0.67–1.1).
  - Overall response rate was 6% for patients who received pazopanib versus 0% for patients who received placebo.
  - The stability of disease rate was 67% for patients who received pazopanib versus 38% for patients who received placebo.
  - The most common grade 3 or 4 toxicities in the pazopanib arm were fatigue, hypertension, diarrhea, anorexia, and transient elevation of liver function test results.

Based on these data, pazopanib was approved by the FDA in 2012 for the treatment of patients with soft tissue sarcomas (except the adipocytic subtypes) who have received previous chemotherapy.

After first-line chemotherapy, other agents can be considered, including:

- Ifosfamide with or without etoposide.
- Dacarbazine.
- Temozolomide.
- Vinorelbine.
- Regorafenib.

#### Immune checkpoint inhibitor therapy

Two trials have explored the immune checkpoint inhibitors pembrolizumab, nivolumab, and ipilimumab. Although some activity has been shown in selected soft tissue sarcoma subtypes, the factors that may predict activity to treatment with immune checkpoint inhibitors remain unknown, and their use cannot be routinely recommended.

Evidence (immune checkpoint inhibitors):

1. The phase II Sarcoma Alliance for Research through Collaboration trial (SARC028 (https://clinicaltrials.gov/ct2/show/NCT02301039) [NCT02301039]) studied treatment with pembrolizumab alone in patients with four soft tissue sarcoma subtypes: undifferentiated pleomorphic sarcoma, synovial sarcoma, leiomyosarcoma, and poorly differentiated or dedifferentiated liposarcoma.[22] Eighty patients were evaluable for response, with half of the patients in the soft tissue sarcoma group and half in the bone sarcoma cohort.
  Responses were noted in the following subtypes:
  - Four of 10 patients with undifferentiated pleomorphic sarcoma.
  - Two of 10 patients with poorly differentiated or dedifferentiated liposarcoma.
  - One of 10 patients with synovial sarcoma.
  - Zero of 10 patients with leiomyosarcoma.
  - The overall response rate was 18%.
2. The phase II Alliance A091401 (https://www.cancer.gov/clinicaltrials/NCT02500797) study (NCT02500797) randomly assigned patients to receive nivolumab (n = 43) versus nivolumab and ipilimumab (n = 42) for the treatment of different soft tissue sarcomas.[23]
  - Two patients in the nivolumab group had an objective response (5%; one patient with alveolar soft-part sarcoma and one patient with leiomyosarcoma). Six patients in the combination group had an objective response (16%; two patients with leiomyosarcoma, one patient with myxofibrosarcoma, two patients with undifferentiated pleomorphic sarcoma, and one patient with angiosarcoma).

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Singer S, Antonescu CR: Molecular biology of sarcomas. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1384-99.
Singer S, Tap WD, Kirsch DG: Soft tissue sarcoma. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1400-49.
O’Donnell RJ, DuBois SG, Haas-Kogan DA: Sarcomas of bone. In: DeVita VT Jr, Lawrence TS, Rosenberg SA, et al., eds.: DeVita, Hellman, and Rosenberg’s Cancer: Principles & Practice of Oncology. 11th ed. Wolters Kluwer, 2019, pp 1450-74.
Midis GP, Pollock RE, Chen NP, et al.: Locally recurrent soft tissue sarcoma of the extremities. Surgery 123 (6): 666-71, 1998.9626317 98289557
Essner R, Selch M, Eilber FR: Reirradiation for extremity soft tissue sarcomas. Local control and complications. Cancer 67 (11): 2813-7, 1991.2025846 91223463
Singer S, Antman K, Corson JM, et al.: Long-term salvageability for patients with locally recurrent soft-tissue sarcomas. Arch Surg 127 (5): 548-53; discussion 553-4, 1992.1575625 92246708
Lewis JJ, Leung D, Heslin M, et al.: Association of local recurrence with subsequent survival in extremity soft tissue sarcoma. J Clin Oncol 15 (2): 646-52, 1997.9053489 97178756
van Geel AN, Pastorino U, Jauch KW, et al.: Surgical treatment of lung metastases: The European Organization for Research and Treatment of Cancer-Soft Tissue and Bone Sarcoma Group study of 255 patients. Cancer 77 (4): 675-82, 1996.8616759 96186851
Casson AG, Putnam JB, Natarajan G, et al.: Five-year survival after pulmonary metastasectomy for adult soft tissue sarcoma. Cancer 69 (3): 662-8, 1992.1730117 92110719
Putnam JB, Roth JA: Surgical treatment for pulmonary metastases from sarcoma. Hematol Oncol Clin North Am 9 (4): 869-87, 1995.7490246 96015099
Bramwell VH, Anderson D, Charette ML, et al.: Doxorubicin-based chemotherapy for the palliative treatment of adult patients with locally advanced or metastatic soft tissue sarcoma. Cochrane Database Syst Rev (3): CD003293, 2003.12917960
Grenader T, Goldberg A, Hadas-Halperin I, et al.: Long-term response to pegylated liposomal doxorubicin in patients with metastatic soft tissue sarcomas. Anticancer Drugs 20 (1): 15-20, 2009.19342997
Lorigan P, Verweij J, Papai Z, et al.: Phase III trial of two investigational schedules of ifosfamide compared with standard-dose doxorubicin in advanced or metastatic soft tissue sarcoma: a European Organisation for Research and Treatment of Cancer Soft Tissue and Bone Sarcoma Group Study. J Clin Oncol 25 (21): 3144-50, 2007.17634494
Maki RG, Wathen JK, Patel SR, et al.: Randomized phase II study of gemcitabine and docetaxel compared with gemcitabine alone in patients with metastatic soft tissue sarcomas: results of sarcoma alliance for research through collaboration study 002 [corrected]. J Clin Oncol 25 (19): 2755-63, 2007.17602081
Okuno S, Ryan LM, Edmonson JH, et al.: Phase II trial of gemcitabine in patients with advanced sarcomas (E1797): a trial of the Eastern Cooperative Oncology Group. Cancer 97 (8): 1969-73, 2003.12673725 22560145
Verma S, Younus J, Stys-Norman D, et al.: Meta-analysis of ifosfamide-based combination chemotherapy in advanced soft tissue sarcoma. Cancer Treat Rev 34 (4): 339-47, 2008.18313854
Nielsen OS, Dombernowsky P, Mouridsen H, et al.: High-dose epirubicin is not an alternative to standard-dose doxorubicin in the treatment of advanced soft tissue sarcomas. A study of the EORTC soft tissue and bone sarcoma group. Br J Cancer 78 (12): 1634-9, 1998.9862576
Schöffski P, Chawla S, Maki RG, et al.: Eribulin versus dacarbazine in previously treated patients with advanced liposarcoma or leiomyosarcoma: a randomised, open-label, multicentre, phase 3 trial. Lancet 387 (10028): 1629-37, 2016.26874885
Demetri GD, von Mehren M, Jones RL, et al.: Efficacy and Safety of Trabectedin or Dacarbazine for Metastatic Liposarcoma or Leiomyosarcoma After Failure of Conventional Chemotherapy: Results of a Phase III Randomized Multicenter Clinical Trial. J Clin Oncol 34 (8): 786-93, 2016.26371143
Grosso F, Jones RL, Demetri GD, et al.: Efficacy of trabectedin (ecteinascidin-743) in advanced pretreated myxoid liposarcomas: a retrospective study. Lancet Oncol 8 (7): 595-602, 2007.17586092
van der Graaf WT, Blay JY, Chawla SP, et al.: Pazopanib for metastatic soft-tissue sarcoma (PALETTE): a randomised, double-blind, placebo-controlled phase 3 trial. Lancet 379 (9829): 1879-86, 2012.22595799
Tawbi HA, Burgess M, Bolejack V, et al.: Pembrolizumab in advanced soft-tissue sarcoma and bone sarcoma (SARC028): a multicentre, two-cohort, single-arm, open-label, phase 2 trial. Lancet Oncol 18 (11): 1493-1501, 2017.28988646
D'Angelo SP, Mahoney MR, Van Tine BA, et al.: Nivolumab with or without ipilimumab treatment for metastatic sarcoma (Alliance A091401): two open-label, non-comparative, randomised, phase 2 trials. Lancet Oncol 19 (3): 416-426, 2018.29370992

## Latest Updates to This Summary (02/21/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

General Information About Soft Tissue Sarcoma

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 1).

Revised text about the rate of new cases and deaths from soft tissue cancer in the United States.

Treatment of Stage IV Soft Tissue Sarcoma

Added Pautier et al. as reference 13.

Revised text about the results of a randomized, open-label, phase III trial that evaluated the combination of doxorubicin and trabectedin compared with doxorubicin alone for treatment-naïve patients with metastatic and unresectable leiomyosarcoma.

Added Treatment of desmoid tumors as a new subsection.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of soft tissue sarcoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Soft Tissue Sarcoma Treatment are:

- Minh Tam Truong, MD (Boston University Medical Center)
- Vinayak Venkataraman, MD

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Soft Tissue Sarcoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/soft-tissue-sarcoma/hp/adult-soft-tissue-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389481]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).